# Complications, Graft-Versus-Host Disease, and Late Effects After Pediatric Hematopoietic Stem Cell Transplant (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the complications, graft-versus-host disease, and late effects after hematopoietic stem cell transplant for the treatment of pediatric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Pretransplant Comorbidities That Affect the Risk of Transplant-Related Mortality: Predictive Power of the Hematopoietic Cell Transplant–Specific Comorbidity Index

Because of the intensity of therapy associated with the transplant process, the pretransplant clinical status of recipients (e.g., age, presence of infections or organ dysfunction, and functional status) is associated with a risk of transplant-related mortality.

The best tool to assess the impact of pretransplant comorbidities on outcomes after transplant was developed by adapting an existing comorbidity scale, the Charlson Comorbidity Index (CCI). Investigators at the Fred Hutchinson Cancer Research Center systematically defined which of the CCI elements were correlated with transplant-related mortality in adult and pediatric patients. They also determined several additional comorbidities that have predictive power specific to transplant patients.

Successful validation defined what is now termed the hematopoietic cell transplant–specific comorbidity index (HCT-CI).[1,2] The rate of transplant-related mortality increases with the presence of cardiac, hepatic, pulmonary, gastrointestinal, infectious, and autoimmune comorbidities, or a history of previous solid tumors (see Table 1).

Table 1. Definitions of Comorbidities Included in the Hematopoietic Cell Transplant–Specific Comorbidity Index (HCT-CI)^a^

HCT-CI Score
1 | 2 | 3
Arrhythmia: Atrial fibrillation or flutter, sick sinus syndrome, or ventricular arrhythmias | Moderate pulmonary: DLCO and/or FEV1 66%–80% or dyspnea on slight activity | Heart valve disease: Excluding mitral valve prolapse
Cardiac: Coronary artery disease,^b^ congestive heart failure, myocardial infarction, or ejection fraction ≤50% | Moderate/severe renal: Serum creatinine >2 mg/dL, on dialysis, or prior renal transplant | Moderate/severe hepatic: Liver cirrhosis, bilirubin >1.5 × ULN, or AST/ALT >2.5 × ULN
Cerebrovascular disease: Transient ischemic attack or cerebrovascular accident | Peptic ulcer: Requiring treatment | Prior solid tumor: Treated at any time in the patient’s history, excluding nonmelanoma skin cancer
Diabetes: Requiring treatment with insulin or oral hypoglycemic agents but not diet alone | Rheumatologic: Systemic lupus erythematosus, rheumatoid arthritis, polymyositis, mixed connective tissue disease, or polymyalgia rheumatica | Severe pulmonary: DLCO and/or FEV1 <65% or dyspnea at rest or requiring oxygen
Hepatic, mild: Chronic hepatitis, bilirubin >ULN or AST/ALT >ULN to 2.5 × ULN
Infection: Requiring continuation of antimicrobial treatment after day 0
Inflammatory bowel disease: Crohn disease or ulcerative colitis
Obesity: Body mass index >35 kg/m^2^
Psychiatric disturbance: Depression or anxiety requiring psychiatric consult or treatment

AST/ALT = aspartate aminotransferase/alanine aminotransferase; DLCO = diffusion capacity of carbon monoxide; FEV1 = forced expiratory volume in one second; ULN = upper limit of normal.

^a^Adapted from Sorror et al.[1]

^b^One-or-more–vessel coronary artery stenosis requiring medical treatment, stent, or bypass graft.

The predictive power of this index for both transplant-related mortality and overall survival (OS) is strong, with a hazard ratio of 3.54 (95% confidence interval [CI], 2.0–6.3) for nonrelapse mortality and 2.69 (95% CI, 1.8–4.1) for survival in patients with a score of 3 or higher, compared with those who have a score of 0. Although the original studies were performed with patients who received intense myeloablative approaches, the HCT-CI has also been shown to predict outcomes for patients receiving reduced-intensity and nonmyeloablative regimens.[3] It has also been combined with disease status [4] and Karnofsky score,[5] leading to even better prediction of survival outcomes. In addition, high HCT-CI scores (>3) have been associated with a higher risk of grades III to IV acute graft-versus-host disease.[6]

Most patients assessed in the HCT-CI studies have been adults, and the comorbidities listed are skewed toward adult diseases. Several studies have explored the relevance of this scale for pediatric and young adult recipients of hematopoietic stem cell transplant (HSCT).

Evidence (use of HCT-CI score in pediatrics):

1. A retrospective cohort study was conducted at four large centers of pediatric patients (median age, 6 years) with a wide variety of both malignant and nonmalignant disorders.[7]
  a. The HCT-CI was predictive of both nonrelapse mortality and survival.
  b. The 1-year nonrelapse mortality rates were:
    - 10% for patients with scores of 0.
    - 14% for patients with scores of 1 to 2.
    - 28% for patients with scores of 3 or higher.
  c. The 1-year OS rates were:
    - 88% for patients with scores of 0.
    - 67% for patients with scores of 1 to 2.
    - 62% for patients with scores of 3 or higher.
2. A second study included young adults (aged 16–39 years) and demonstrated the following:[8]
  - Similar increases in mortality with higher HCT-CI scores.
  - The nonrelapse mortality rates were 24% for patients with scores of 0 to 2 and 38% for patients with scores of 3 or higher.
  - The OS rates were 46% for patients with scores of 0 to 2 and 28% for patients with scores of 3 or higher.
3. A prospective validation of the HCT-CI through the Center for International Blood and Marrow Transplant Research included 23,876 patients, 1,755 of whom were children, who underwent transplant between 2007 and 2009. Patients' HCT-CI scores and outcomes were tracked.[9]
  - Although adults treated with myeloablative regimens had increased mortality rates with HCT-CI scores of 1 or 2, pediatric patients did not have increased mortality rates until a score of 3 or higher was noted.

Most of the reported comorbidities in these studies were respiratory or hepatic conditions and infections.[7,8] In the adolescent and young adult study, patients with pre-HSCT pulmonary dysfunction were at particularly higher risk of poor outcomes, with a 2-year OS rate of 29%, compared with 61% in those with normal lung function before HSCT.[8]

### References

Sorror ML, Maris MB, Storb R, et al.: Hematopoietic cell transplantation (HCT)-specific comorbidity index: a new tool for risk assessment before allogeneic HCT. Blood 106 (8): 2912-9, 2005.15994282
ElSawy M, Storer BE, Pulsipher MA, et al.: Multi-centre validation of the prognostic value of the haematopoietic cell transplantation- specific comorbidity index among recipient of allogeneic haematopoietic cell transplantation. Br J Haematol 170 (4): 574-83, 2015.25945807
Sorror ML, Storer BE, Maloney DG, et al.: Outcomes after allogeneic hematopoietic cell transplantation with nonmyeloablative or myeloablative conditioning regimens for treatment of lymphoma and chronic lymphocytic leukemia. Blood 111 (1): 446-52, 2008.17916744
Sorror ML, Sandmaier BM, Storer BE, et al.: Comorbidity and disease status based risk stratification of outcomes among patients with acute myeloid leukemia or myelodysplasia receiving allogeneic hematopoietic cell transplantation. J Clin Oncol 25 (27): 4246-54, 2007.17724349
Sorror M, Storer B, Sandmaier BM, et al.: Hematopoietic cell transplantation-comorbidity index and Karnofsky performance status are independent predictors of morbidity and mortality after allogeneic nonmyeloablative hematopoietic cell transplantation. Cancer 112 (9): 1992-2001, 2008.18311781
Sorror ML, Martin PJ, Storb RF, et al.: Pretransplant comorbidities predict severity of acute graft-versus-host disease and subsequent mortality. Blood 124 (2): 287-95, 2014.24797298
Smith AR, Majhail NS, MacMillan ML, et al.: Hematopoietic cell transplantation comorbidity index predicts transplantation outcomes in pediatric patients. Blood 117 (9): 2728-34, 2011.21228326
Wood W, Deal A, Whitley J, et al.: Usefulness of the hematopoietic cell transplantation-specific comorbidity index (HCT-CI) in predicting outcomes for adolescents and young adults with hematologic malignancies undergoing allogeneic stem cell transplant. Pediatr Blood Cancer 57 (3): 499-505, 2011.21384538
Sorror ML, Logan BR, Zhu X, et al.: Prospective Validation of the Predictive Power of the Hematopoietic Cell Transplantation Comorbidity Index: A Center for International Blood and Marrow Transplant Research Study. Biol Blood Marrow Transplant 21 (8): 1479-87, 2015.25862591

## Hematopoietic Stem Cell Transplant (HSCT)–Related Acute Complications

### Infectious Risks and Immune Recovery After Transplant

Defective immune reconstitution is a major barrier to successful HSCT, regardless of graft source.[1,2] Serious infections have accounted for a significant percentage (4%–20%) of late deaths after HSCT.[3]

Factors that can significantly slow immune recovery include the following:[4]

- Graft manipulation (removal of T cells).
- Stem cell source (slow recovery with cord blood).
- Chronic graft-versus-host disease (GVHD).

Figure 1 illustrates the immune defects, contributing transplant-related factors, and types and timing of infections that occur after allogeneic transplant.[5]

Figure 1. Phases of predictable immune suppression with their opportunistic infections among allogeneic hematopoietic stem cell transplant recipients. Adapted from Burik and Freifeld. This figure was published in Clinical Oncology, 3rd edition, Abeloff et al., Chapter: Infection in the severely immunocompromised patient, Pages 941–956, Copyright Elsevier (2004).

Chart showing phases of predictable immune suppression and associated opportunistic infections among allogeneic hematopoietic stem cell transplantation recipients.

Bacterial infections tend to occur in the first few weeks after transplant during the neutropenic phase, when mucosal barriers are damaged from the conditioning regimen. There is significant ongoing research into the role of prophylactic antibacterial medications during the neutropenic phase.[6]

A joint effort between the Centers for Disease Control and Prevention, the Infectious Disease Society of America, and the American Society of Transplantation and Cellular Therapy established guidelines for the prevention of infections after HSCT.[7] Approaches include preventive or prophylactic antivirals, antifungals, and antibiotics; escalation to heightened empiric therapy for signs of infection; and continued careful monitoring through the full duration of the immunocompromised period after HSCT.

Prophylaxis against fungal infections is standard during the first several months after transplant and may be considered for patients with chronic GVHD who are at high risk of fungal infection. Antifungal prophylaxis must be tailored to the patient's underlying immune status. Pneumocystis infections can occur in all patients after bone marrow transplants, and prophylaxis is mandatory.[6]; [8][Level of evidence C1]

After HSCT, viral infections can be a major source of mortality, especially after T-cell–depleted or cord blood procedures. Types of viral infections include the following:

- Cytomegalovirus (CMV). CMV infection has been a major cause of mortality in the past, but today, effective drugs to treat CMV are available. In addition, preventive strategies, including quantitative polymerase chain reaction (PCR) monitoring followed by preemptive therapy with ganciclovir, have been developed. In addition, the U.S. Food and Drug Administration (FDA) approved letermovir for CMV prophylaxis in adults. There is solid experience using letermovir in children aged 12 years and older and emerging experience in children younger than 12 years.[9,10]
- Epstein-Barr virus (EBV). EBV rarely causes lymphoproliferative disease and is generally associated with intensive, multidrug GVHD therapy or T-cell–depleted HSCT.
- Adenovirus. Adenovirus infection is a major issue in T-cell–depleted transplant, and monitoring by quantitative blood PCR followed by therapy with cidofovir or brincidofovir (available through a compassionate-use protocol) has led to a major decrease in morbidity.[11]
- Other. Other viruses have been implicated in hemorrhagic cystitis (BK virus), encephalitis and poor count recovery (human herpes virus 6), and other clinical issues.[6] One study suggested that high BK viral loads early after transplant (4–7 weeks) may be associated with long-term decreases in glomerular filtration rate.[12]

Careful viral monitoring is essential during high-risk allogeneic procedures.

Late bacterial infections can occur in patients who have central lines or patients with significant chronic GVHD. These patients are susceptible to infection with encapsulated organisms, particularly pneumococcus. Despite reimmunization, these patients can sometimes develop significant infections, and continued prophylaxis is recommended until a serological response to immunizations has been documented. Occasionally, postallogeneic HSCT patients can become functionally asplenic, and antibiotic prophylaxis is recommended. Patients should remain on infection prophylaxis (e.g., Pneumocystis jirovecii pneumonia prophylaxis) until immune recovery. Time to immune recovery varies but ranges from 3 months to 9 months after autologous HSCT, and 9 months to 24 months after allogeneic HSCT without GVHD. Patients with active chronic GVHD may have persistent immunosuppression for years. Many centers monitor T-cell subset recovery after bone marrow transplants as a guide to infection risk.[6]

#### Vaccination after transplant

International transplant and infectious disease groups have developed specific guidelines for the administration of vaccines after autologous and allogeneic transplants.[6,13-15] Comparative studies aimed at defining ideal timing of vaccination after transplant have not been performed, but the vaccine guidelines outlined in Table 2 result in protective titers in most patients who receive vaccinations. These guidelines recommend that autologous transplant recipients receive immunizations beginning at 6 months after stem cell infusion and receive live vaccines 24 months after the transplant. Patients undergoing allogeneic procedures can begin immunizations as soon as 6 months after transplant. However, many groups prefer to wait either until 12 months after the procedure for patients who continue to receive immunosuppressive drugs or until patients are no longer receiving immunosuppressants.

Vaccination recommendations should be reconsidered at times of local endemic or epidemic disease outbreaks. In those settings, earlier vaccination with killed vaccines may be implemented, acknowledging limited host responses. SARS-CoV-2 vaccination recommendations have been included in a recently updated consensus guideline on vaccines after HSCT.[15] Efficacy in gaining protective immunity has been noted with early studies, but given the way the virus has changed over time, the approach to vaccination for SARS-CoV-2 is an ongoing area of study.[16]

Table 2. Vaccination Schedule for Hematopoietic Stem Cell Transplant (HSCT) Recipients^a^

Autologous HSCT | 6 Mo^b^ | 8 Mo^b^ | 12 Mo^b^ | 24 Mo^b^
Allogeneic HSCT (if not immunized before 12 mo post-HSCT; start regardless of GVHD status or immunosuppression) | 12 mo^b^ (sooner if off immunosuppression) | 14 mo^b^ (or 2 mo after first dose) | 18 mo^b^ (or 6 mo after first dose) | 24 mo^b^
Inactivated Vaccines
Diphtheria, tetanus, acellular pertussis (DTap) | X^c^ | X^c^ | X^c,d^
Haemophilus influenzae (Hib) | X | X | X^d^
Hepatitis B (HepB) | X | X | X^d^
Inactive polio (IPV) | X | X | X^d^
Influenza—seasonal injection (IM) | X^e^
Pneumococcal conjugate (PCV 7, PCV 13) | X^f^ | X | X^d,f,g^
Pneumococcal polysaccharide (PPV 23) | | | X^d,f,g^
Live Attenuated Vaccines (contraindicated in patients with active GVHD or on immunosuppression)
Measles, mumps, rubella | | | | X^d,h^
Optional Inactivated Vaccines
Hepatitis A | | | Optional
Meningococcal | | | X^d^ (for high-risk patients)
Optional Live Vaccines (contraindicated in patients with active GVHD or on immunosuppression)
Chicken pox (varicella vaccine) | | | | Optional
Rabies | | | May be considered at 12–24 mo if exposed
Yellow fever, tick-borne encephalitis (TBE), Japanese B encephalitis | | | | For travel in endemic areas
Contraindicated Vaccines
Intranasal influenza (trivalent live-attenuated influenza vaccine)—household contacts and caregivers should not receive within 2 weeks before contact with HSCT recipient; shingles; bacillus Calmette-Guerin (BCG); oral polio vaccine (OPV); cholera; typhoid vaccine (PO, IM); rotavirus.

GVHD = graft-versus-host disease; IM = intramuscular; PO = orally.

^a^Adapted from Tomblyn et al.,[6] Centers for Disease Control and Prevention,[7] and Kumar et al.[17]

^b^Times indicated are times posttransplant (day 0).

^c^Use of Tdap is acceptable if DTap is not available.

^d^Titers may be considered for pediatric patients and patients with GVHD who received immunizations while on immune suppression (minimum 6–8 weeks after last vaccination).

^e^May start as soon as 4 months post-HSCT or sooner for patients with CD_4_ counts >200/mcL or at any time during an epidemic. If given <6 months after HSCT, may require second dose. Children younger than 9 years require second dose, separated by 1 month.

^f^Consider pre- or postvaccine (at least 6–8 weeks after) titers.

^g^PCV 7 at 24 months only for patients with GVHD; all other patients can get PPV 23.

^h^Pediatric patients should receive two doses at least 1 month apart.

### Sinusoidal Obstruction Syndrome/Veno-Occlusive Disease (SOS/VOD)

Pathologically, SOS/VOD of the liver is the result of damage to the hepatic sinusoids, resulting in biliary obstruction. This syndrome has been estimated to occur in 15% to 40% of pediatric patients who undergo myeloablative transplants.[18,19]

Risk factors for SOS/VOD include the following:[18,19]

- Use of busulfan (especially before therapeutic pharmacokinetic monitoring).
- Total-body irradiation.
- Serious infection.
- GVHD.
- Preexisting liver dysfunction caused by hepatitis or iron overload.

SOS/VOD is defined clinically by the following:

- Right upper quadrant pain with hepatomegaly.
- Fluid retention (weight gain and ascites).
- Hyperbilirubinemia.

Life-threatening SOS/VOD generally occurs soon after transplant and is characterized by multiorgan system failure.[20] Milder, reversible forms can occur, with full recovery expected. Pediatric patients who have severe SOS/VOD without increased bilirubin have been reported.[21] Therefore, it is important to be vigilant about monitoring patients who have other symptoms without increased bilirubin.

#### Diagnosis of SOS/VOD

Older definitions of SOS/VOD include the modified Seattle criteria or the Baltimore criteria.

- In the Seattle criteria, at least two of the following must be present by day 20 post HSCT:[22]
  - Bilirubin level higher than 2 mg/dL.
  - Hepatomegaly or right upper quadrant pain.
  - Weight gain (>2%).
- In the Baltimore criteria, a bilirubin level of 2 mg/dL or higher and at least two of the following must be present by day 21 post HSCT:[23]
  - Painful hepatomegaly.
  - Weight gain (>5%).
  - Ascites.

These definitions are inadequate, especially in pediatric practice, as they do not recognize late-onset SOS/VOD or VOD with normal bilirubin levels.

The European Society for Blood and Marrow Transplantation (EBMT) have published revised criteria that are now broadly in use.[24] These criteria recognize late-onset SOS/VOD if proved histologically or have hemodynamic and/or ultrasound evidence of SOS/VOD (hepatomegaly, ascites, and decrease in velocity or reversal of portal flow). They have also included a modification for pediatric patients,[25] with no time limitation for SOS/VOD onset and the presence of two or more of the following:

- Unexplained consumptive and transfusion-refractory thrombocytopenia.
- Otherwise unexplained weight gain on three consecutive days, despite the use of diuretics, or weight gain greater than 5% above baseline value.
- Hepatomegaly above baseline value (best if confirmed by imaging).
- Ascites above baseline value (best if confirmed by imaging).
- Rising bilirubin level from a baseline value on three consecutive days or bilirubin level of 2 mg/dL or higher within 72 hours.

An additional modification of the diagnostic algorithm (Cairo/Cooke criteria) has been proposed, which allows for flexibility with symptoms in unusual situations.[26] The EBMT and Cairo/Cooke criteria have not been prospectively validated in clinical trials.

#### Prevention and treatment of SOS/VOD

Approaches to both prevention and treatment with agents such as heparin, protein C, and antithrombin III have been studied, with mixed results.[27] One small, retrospective, single-center study showed a benefit from corticosteroid therapy, but further validation is needed.[28]

Another agent with demonstrated activity is defibrotide, a mixture of oligonucleotides with antithrombotic and fibrinolytic effects on microvascular endothelium. Studies of defibrotide have shown the following:

- Decreased mortality in patients who were treated with defibrotide for severe SOS/VOD, compared with historical controls.[29-32]; [33][Level of evidence C1]
- Decreased SOS/VOD mortality associated with the early initiation of defibrotide treatment soon after diagnostic criteria for SOS/VOD were met.[34][Level of evidence B4]
- Efficacy in decreasing SOS/VOD incidence when used prophylactically.[35][Level of evidence A1] However, a second study was closed due to a lack of efficacy, questioning the validity of prophylactic defibrotide use.[36]

The FDA approved defibrotide for the treatment of patients who have hepatic SOS/VOD with renal or pulmonary dysfunction after HSCT.

The British Society for Blood and Marrow Transplantation (BSBMT) published evidence-guided recommendations for the diagnosis and management of SOS/VOD.[32] They recommend that biopsy be reserved for difficult cases and be performed using the transjugular approach. The BSBMT supports the use of defibrotide for the prevention of SOS/VOD (defibrotide prophylaxis is not currently part of the FDA indication) but maintains there is insufficient data to support the use of prostaglandin E1, pentoxifylline, or antithrombin. For treatment of SOS/VOD, they recommend aggressive fluid balance management, early involvement of critical care and gastroenterology specialists, and the use of defibrotide and possibly methylprednisolone. However, they concluded there is insufficient evidence to support the use of tissue plasminogen activator or N-acetylcysteine.[32,37] The Pediatric Transplantation and Cellular Therapy Consortium, which worked with the Pediatric Acute Lung Injury and Sepsis Investigators, published more detailed consensus recommendations for the diagnosis and management of SOS/VOD in children after HSCT.[38-40]

### Transplant-Associated Thrombotic Microangiopathy (TA-TMA)

Although TA-TMA clinically mirrors hemolytic uremic syndrome, its causes and clinical course differ from those of other hemolytic uremic syndrome–like diseases. Studies have linked this syndrome with dysregulation of complement pathways.[41] TA-TMA has most frequently been associated with the use of the calcineurin inhibitors tacrolimus and cyclosporine, and it has been noted to occur more frequently when either of these medications is used in combination with sirolimus.[42]

Diagnostic criteria for this syndrome have been updated based on expert consensus opinion and are a modification of criteria published in 2014 (see Table 3).[43,44]

Table 3. TMA Harmonization Panel Consensus Recommended Diagnostic Criteria, Modified Jodele Criteria^a^

Biopsy-proven disease (kidney or GI) OR
Clinical criteria: Must meet ≥4 of the following 7 criteria within 14 days at 2 consecutive time points
Anemia^b^ | Defined as one of the following:
Anemia^b^ | 1. Failure to achieve transfusion independence for pRBCs despite evidence of neutrophil engraftment
Anemia^b^ | 2. Hemoglobin decline from patient’s baseline by 1 g/dL
Anemia^b^ | 3. New onset of transfusion dependence
Anemia^b^ | Rule out other causes of anemia, such as AIHA and PRCA
Thrombocytopenia^b^ | Defined as one of the following:
Thrombocytopenia^b^ | 1. Failure to achieve platelet engraftment
Thrombocytopenia^b^ | 2. Higher than expected platelet transfusion needs
Thrombocytopenia^b^ | 3. Refractoriness to platelet transfusion
Thrombocytopenia^b^ | 4. 50% reduction or greater in baseline platelet count after full platelet engraftment
Elevated LDH | >ULN for age
Schistocytes | Present
Hypertension | >99th percentile for age (<18 y), or systolic BP ≥140 mm Hg or diastolic BP ≥90 mm Hg (≥18 y)
Elevated sC5b-9 | ≥ULN
Proteinuria | ≥1 mg/mg rUPCR

AIHA = autoimmune hemolytic anemia; BP = blood pressure; GI = gastrointestinal; LDH = lactate dehydrogenase; pRBCs = packed red blood cells; PRCA = pure red cell aplasia; rUPCR = random urine protein to creatinine ratio; ULN = upper limit of normal.

^a^Reprinted with permission from Schoettler et al., which is available under the Creative Commons CC-BY-NC-ND license.[43]

^b^Indicates clarification from published Jodele et al. criteria.[45]

Evidence (impact of TA-TMA on HSCT outcomes):

1. A multicenter study of TA-TMA in pediatric patients used the following definition of TA-TMA:[46]
  a. Histological evidence of TA-TMA, or
  b. Presence of at least four of the following laboratory and clinical markers diagnostic for TA-TMA:
    - Lactate dehydrogenase (LDH) levels above reference value for age.
    - Schistocytes on peripheral blood smear.
    - De novo thrombocytopenia or requirement for platelet transfusions.
    - De novo anemia or requirement for red blood cell transfusions.
    - Hypertension greater than 99% for age (aged <18 years) or 140/90 mm Hg (aged ≥18 years) requiring ≥2 antihypertensive agents.
    - Proteinuria ≥30 mg/dL on random urine analysis twice or random urine protein to creatinine ratio >1 mg/mg.
    - Terminal complement activation: Elevated plasma sC5b-9 above normal limit (≥244 ng/mL).
  c. This study demonstrated the following results:
    - In 614 sequential patients who underwent allogeneic or autologous HSCT, 19% of allogeneic recipients and 10% of autologous recipients developed TA-TMA.
    - Patients who developed TA-TMA had increased rates of acute GVHD and steroid-refractory GVHD, intensive care unit admission, invasive ventilation, pericardial effusions, pulmonary hypertension, dialysis or continuous renal replacement therapy, acute kidney injury, and VOD.
    - In patients who underwent allogeneic HSCT, treatment-related mortality during the first 6 months was significantly higher in patients with TA-TMA than in those without TA-TMA (20% vs. 3%; P ≤ .0001).
    - In patients who underwent autologous HSCT, the overall survival (OS) rate during the first 6 months was significantly lower in patients with TA-TMA than in those without TA-TMA (79% vs. 98%; P = .001).

#### Treatment of TA-TMA

Treatment for TA-TMA includes the following:

- Cessation of the calcineurin inhibitor and substitution with other immune suppressants, if necessary.
- Careful management of hypertension and renal damage by dialysis, if necessary.

Prognosis for normal kidney function when disease is caused by calcineurin inhibitors alone is generally poor. However, most TA-TMA that is associated with the combination of a calcineurin inhibitor and sirolimus has been reversed after sirolimus is discontinued, and in some cases, after both medications are stopped.[42]

Some evidence suggests a role for complement modulation (c5, eculizumab therapy) in preserving renal function. Further assessment of the role of this medication in treating this complication is ongoing.[47-49] Although there are no randomized trials that used eculizumab to treat TA-TMA, there are published data from retrospective institutional and multicenter studies and one prospective trial. Historically, the 1-year survival rate for untreated patients with high-risk TA-TMA was about 20%.[50] Two retrospective studies that examined the use of eculizumab showed survival that was better than historical controls. A single-center study showed a 1-year OS rate of 66%,[50] and a multicenter study reported a 6-month OS rate of 47% with eculizumab treatment.[51] Another retrospective multicenter study that examined the use of eculizumab demonstrated a 6-month response rate of 62% and a 1-year OS rate of 55%.[52]

Evidence (treatment of high-risk TA-TMA with eculizumab):

A prospective multicenter trial enrolled 21 patients with high-risk TA-TMA and multisystem organ dysfunction. The eculizumab dosing regimen included intensive loading, induction, and maintenance phases for up to 24 weeks of therapy.[44]

- The primary outcome was met, with an OS rate of 71% at 6 months after HSCT (vs. 18% for untreated historical controls; P < .0001).
- Eleven of fifteen survivors (73%) had fully recovered organ function at the time of reporting.

### Idiopathic Pneumonia Syndrome (IPS)

IPS is characterized by diffuse, noninfectious lung injury that occurs between 14 and 90 days after the infusion of donor cells. Possible etiologies include direct toxic effects of conditioning regimens and occult infection leading to secretion of high levels of inflammatory cytokines into the alveoli.[53]

The incidence of IPS appears to be decreasing, possibly because of less intensive preparative regimens, better HLA matching, and better definition of occult infections through PCR testing of blood and bronchioalveolar specimens. Mortality rates of 50% to 70% have been reported.[53] However, these estimates are from the mid-1990s, and outcomes may have improved.

Diagnostic criteria include the following signs and symptoms in the absence of documented infectious organisms:[54]

- Pneumonia.
- Evidence of nonlobar radiographic infiltrates.
- Abnormal pulmonary function.

Early assessment by bronchioalveolar lavage to rule out infection is important.

#### Treatment of IPS

The traditional therapy for IPS has been high-dose methylprednisolone and pulmonary support.

Etanercept is a soluble fusion protein that joins the extracellular ligand-binding domain of the tumor necrosis factor (TNF)–alpha receptor to the Fc region of the immunoglobulin G1 antibody. It acts by blocking TNF-alpha signaling. The addition of etanercept to steroid therapies has shown promising short-term outcomes (extubation, improved short-term survival) in single-center studies.[55] A large phase II trial of this approach in pediatric patients showed promising results, with OS rates of 89% at 1 month and 63% at 12 months.[56]

### Autoimmune Cytopenias (AIC)

AIC after allogeneic HSCT can be restricted to one cell lineage (e.g., autoimmune hemolytic anemia), two cell lineages, or three cell lineages. Most data about AIC in pediatric patients after HSCT are reported from single-center experiences, with the number of cases ranging from 20 to 30 over a 10- to 20-year period.[57-59] The incidence of AIC is about 5% after allogeneic HSCT. Risk factors for developing AIC seem to be age younger than 10 years and having a nonmalignant disease as an HSCT indication. At least one study has identified use of serotherapy, use of cord blood as the donor source, and severe GVHD as risk factors, but this finding has not been confirmed in other studies. One study demonstrated that patients who develop AIC have inferior outcomes compared with patients who did not develop AIC.[59] However, other studies did not demonstrate an inferior outcome.[57,58]

The National Institutes of Health task force on chronic GVHD has recognized AIC as a possible atypical feature of chronic GVHD (although they may be distinct pathologically).[60] This group has created standardized diagnostic criteria and a proposed prospective study of this complication.

#### Treatment of AIC

The most common first-line therapy for AIC has been corticosteroids.[57-59] Additional immunosuppression or B-cell targeting monoclonal antibodies have been used and produced good responses. Intravenous immunoglobulin is used frequently as adjunct treatment for AIC and/or immunoglobulin replacement.[61] Some clinicians have used bortezomib or daratumumab as third-line agents, with responses noted.[62]

### Epstein-Barr Virus (EBV)–Associated Lymphoproliferative Disorder

After HSCT, EBV infection incidence increases through childhood, from approximately 40% in children aged 4 years to more than 80% in teenagers. Patients with a history of previous EBV infection are at risk of EBV reactivation when undergoing HSCT procedures that result in intense, prolonged lymphopenia (T-cell–depleted procedures, use of antithymocyte globulin [ATG] or alemtuzumab, and, to a lesser degree, use of cord blood).[63-65]

Features of EBV reactivation can vary, from an isolated increase in EBV titers in the bloodstream as measured by PCR to an aggressive monoclonal disease with marked lymphadenopathy presenting as lymphoma (lymphoproliferative disorder).

#### Treatment of EBV-associated lymphoproliferative disorder

Isolated bloodstream reactivation of EBV can improve in some cases without therapy as immune function improves. However, lymphoproliferative disorder requires more aggressive therapy.

Treatment of EBV-associated lymphoproliferative disorder involves decreasing immune suppression and treatment with chemotherapy agents such as cyclophosphamide. CD20-positive EBV-associated lymphoproliferative disorder and EBV reactivation have been shown to respond to therapy with the CD20 monoclonal antibody therapy rituximab.[66-68] In addition, some centers have shown efficacy in treating or preventing this complication with therapeutic or prophylactic EBV-specific cytotoxic T cells.[69-71]

Improved understanding of the risk of EBV reactivation, early monitoring, and aggressive therapy have significantly decreased the risk of mortality from this challenging complication.

### Acute GVHD

GVHD is the result of immunologic activation of donor lymphocytes targeting major or minor HLA disparities in the tissues of a recipient.[72] Acute GVHD usually occurs within the first 3 months posttransplant, although delayed acute GVHD has been noted with reduced-intensity conditioning and nonmyeloablative approaches, where achieving a high level of full donor chimerism is sometimes delayed.

Typically, acute GVHD presents with at least one of the following:

- Skin rash.
- Hyperbilirubinemia.
- Secretory diarrhea.

Acute GVHD is classified by staging the severity of skin, liver, and gastrointestinal involvement, and further combining the individual staging of these three areas into an overall grade that is prognostically significant (see Tables 4 and 5).[73] Patients with grade III or grade IV acute GVHD are at higher risk of mortality, generally resulting from organ system damage caused by infections or progressive acute GVHD that is sometimes resistant to therapy.

Table 4. Staging of Acute Graft-Versus-Host Disease (GVHD)^a^

Stage | Skin | Liver (bilirubin)^b^ | GI/Gut (stool output per day)^c^
| | | Adult | Child
0 | No GVHD rash | <2 mg/dL | <500 mL or <3 episodes/day | <10 mL/kg or <4 episodes/day
1 | Maculopapular rash <25% BSA | 2–3 mg/dL | 500–999 mL^d^ or 3–4 episodes/day | 10–19.9 mL/kg or 4–6 episodes/day; persistent nausea, vomiting, or anorexia, with a positive result from upper GI biopsy
2 | Maculopapular rash 25%–50% BSA | 3.1–6 mg/dL | 1,000–1,500 mL or 5–7 episodes/day | 20–30 mL/kg or 7–10 episodes/day
3 | Maculopapular rash >50% BSA | 6.1–15 mg/dL | >1,500 mL or >7 episodes/day | >30 mL/kg or >10 episodes/day
4 | Generalized erythroderma plus bullous formation and desquamation >5% BSA | >15 mg/dL | Severe abdominal pain^e^ with or without ileus, or grossly bloody stool (regardless of stool volume) | Severe abdominal pain^e^ with or without ileus, or grossly bloody stool (regardless of stool volume)

BSA = body surface area; GI = gastrointestinal.

^a^Adapted from Harris et al.[74]

^b^There is no modification of liver staging for other causes of hyperbilirubinemia.

^c^For GI staging: The adult stool output values should be used for patients weighing >50 kg. Use 3-day averages for GI staging based on stool output. If stool and urine are mixed, stool output is presumed to be 50% of total stool/urine mix.

^d^If results of colon or rectal biopsy are positive but stool output is <500 mL/day (<10 mL/kg/day), then consider as GI stage 0.

^e^For stage 4 GI: the term severe abdominal pain will be defined as having both (a) pain control requiring treatment with opioids or an increased dose in ongoing opioid use and (b) pain that significantly impacts performance status, as determined by the treating physician.

Table 5. Overall Clinical Grade (Based on the Highest Stage Obtained)

Grade 0: | No stage 1–4 of any organ
Grade I: | Stage 1–2 skin and no liver or gut involvement
Grade II: | Stage 3 skin and/or stage 1 liver involvement and/or stage 1 GI
Grade III: | Stage 0–3 skin, with stage 2–3 liver and/or stage 2–3 GI
Grade IV: | Stage 4 skin, liver, or GI involvement

GI = gastrointestinal.

Because the outcomes of patients with different grades of acute GVHD vary, investigators have sought to more precisely define acute GVHD risk based on serum biomarkers. A study that included both adults and children used a score calculated based on the levels of a combination of three biomarkers (tumor necrosis factor receptor 1 [TNFR1], suppression of tumorigenicity 2 [ST2], and regenerating islet-derived 3-alpha [REG3-alpha]), measured at the onset of acute GVHD. Investigators were able to define patients with low (8%), intermediate (27%), and high (46%, P < .0001) risk of 6-month mortality. The biomarker score was more sensitive and specific for predicting survival than clinical staging.[75] Additional refining of the prediction algorithm showed that measurement of only two biomarkers (ST2 and REG3-alpha) reliably predicted outcome. In addition, after 4 weeks of therapy, changes in the biomarker score were able to further refine prediction of survival outcomes.[76] These findings have led to several studies targeting biomarker high-risk or low-risk subsets of patients with acute GVHD and are influencing clinicians regarding the timing and intensity of acute GVHD therapies.

#### Prevention and treatment of acute GVHD

Morbidity and mortality from acute GVHD can be reduced through immune suppressive medications given prophylactically or T-cell depletion of grafts, either ex vivo by actual removal of cells from a graft or in vivo with anti–T-lymphocyte antibodies (ATG or anti-CD52 [alemtuzumab]). A newer approach includes administering posttransplant cyclophosphamide on days 3 and 4 after HSCT.[77] While it does not affect stem cells in the graft, cyclophosphamide eliminates or reduces the function or proliferation of alloreactive T cells,[78] markedly decreasing rates of both acute and chronic GVHD.

Complete elimination of acute GVHD with intense T-cell depletion has generally resulted in increased relapse, more infectious morbidity, and increased EBV-associated lymphoproliferative disorder. Because of this issue, most HSCT GVHD prophylaxis approaches try to balance risk by giving sufficient immune suppression to prevent severe acute and/or chronic GVHD but not completely remove GVHD risk.

##### GVHD prophylaxis approaches

GVHD prophylaxis has evolved, from one approach for all donor types to specific and varied approaches tailored to the following factors:

- Stem cell sources. For example, using higher intensity prophylaxis for mismatched bone marrow/peripheral blood stem cell (PBSC) HSCT, compared with low intensity/early immune tapering for matched-sibling bone marrow HSCT.[79]
- Clinical situations. For example, using planned early tapering of prophylaxis for high-risk disease to stimulate the graft-versus-leukemia (GVL) effect.[79]
- Intensity of the HSCT procedure. For example, using less intense prophylaxis for reduced-intensity regimens to increase the GVL effect because of the absence of myeloablation for disease control.

Because of these factors, it is best to consider the combination of preparative regimen, GVHD prophylaxis, and stem cell source as a unit because survival and toxicity outcomes vary if any of these three elements change.

###### GVHD prophylaxis for matched-sibling HSCT

The most commonly used GVHD prophylaxis approaches in pediatrics for matched-sibling HSCT consist of a calcineurin inhibitor (cyclosporine or tacrolimus), either as a single agent or in combination with methotrexate.[80,81] Doses of methotrexate are often lower for matched-sibling HSCT than for unrelated-donor HSCT. Many centers choose to give prophylaxis on three, rather than four, days after HSCT (days 1, 3, 6, and maybe 11). A large Children's Oncology Group study had good results tapering the calcineurin inhibitor on day 42 and discontinuing it by day 96 when using matched-sibling HSCT,[82] but the traditional taper starts on day 100 posttransplant and continues over 3 months when using unrelated bone marrow/PBSC and cord blood HSCT.

A calcineurin inhibitor in combination with mycophenolate mofetil has also been used with matched-sibling HSCT, especially when reduced-intensity conditioning approaches are used.[83] Posttransplant cyclophosphamide is effective in adult matched-sibling HSCT,[84] but has generally been given with PBSCs in combination with reduced-intensity conditioning approaches. Limited data address the use of posttransplant cyclophosphamide in children undergoing matched-sibling HSCT using bone marrow as a stem cell source,[85] but outcomes appear similar to standard approaches.

###### GVHD prophylaxis for matched unrelated-donor HSCT

A calcineurin inhibitor in combination with methotrexate (10 mg/m^2^ for four doses) has been a standard approach that leads to excellent outcomes.[82] However, more recent studies have also shown excellent outcomes with posttransplant cyclophosphamide.[86-88]

A number of studies have assessed the role of ATG or alemtuzumab (both considered serotherapy, antibodies that deplete T cells) in improving outcomes after unrelated-donor bone marrow transplant.[89-91] Serotherapy includes anti–T-cell approaches (equine ATG and rabbit ATG [rATG] against either a human T-cell leukemia line [ATG-Fresenius] or human thymocytes [thymoglobulin]) and anti-CD52 antibodies (alemtuzumab). Most centers use serotherapy after HSCT for nonmalignant diseases where GVL is not as important, but the results have varied when treating malignancies. Reasonable evidence suggests that when unrelated-donor PBSCs are used, serotherapy may be beneficial. Studies in children who received unrelated-donor bone marrow HSCT have shown that targeting rATG in a pharmacokinetic-dependent model leads to faster immune recovery and better outcomes.[92,93]

A combined adult and pediatric study compared abatacept (T-cell costimulatory blocker) plus a calcineurin inhibitor/methotrexate with placebo plus a calcineurin inhibitor/methotrexate. Patients who received abatacept had improved rates of grades 2 to 4 acute GVHD and severe GVHD-free survival.[94]

###### GVHD prophylaxis for mismatched unrelated-donor HSCT

Use of a calcineurin inhibitor/methotrexate for mismatched unrelated-donor HSCT has led to higher rates of severe GVHD and lower rates of survival. This outcome is partially mitigated by the use of serotherapy in combination with a calcineurin inhibitor/methotrexate. Using this combined approach, the International BFM Study Group has considered the use of a single-antigen mismatched donor (7/8 or 9/10) to be a well-matched donor, with outcomes similar to those with matched unrelated donors.[95]

A prospective trial in mismatched unrelated-donor recipients added abatacept to a calcineurin inhibitor/methotrexate regimen. The study showed a marked improvement in severe acute GVHD and OS, compared with a Center for International Blood and Marrow Transplant Research (CIBMTR) control trial that used a calcineurin inhibitor/methotrexate alone.[94] An analysis of the CIBMTR registry showed similar relapse-free survival for mismatched unrelated-donor recipients using abatacept or posttransplant cyclophosphamide.[96] Posttransplant cyclophosphamide approaches have also led to improvements in outcomes when mismatched unrelated-donor HSCT have been used. A key trial run by the National Marrow Donor Program tested posttransplant cyclophosphamide using single and multiply mismatched unrelated donors. The results showed impressive decreases in acute and chronic GVHD and improved event-free survival and OS.[97] While these new approaches have revived interest in mismatched unrelated-donor use, prospective trials comparing mismatched unrelated donors using these new approaches with unrelated cord blood or haploidentical stem cell sources have not been performed.

###### GVHD prophylaxis for unrelated-donor cord blood HSCT

A calcineurin inhibitor/methotrexate and cyclosporine/prednisone regimen has been used as GVHD prophylaxis in cord blood HSCT. However, a number of studies in pediatric patients have documented better survival and GVHD outcomes using a calcineurin inhibitor/mycophenolate mofetil combination.[97-99] Although serotherapy has often been used for cord blood HSCT, especially in the context of nonmalignant indications, there is good evidence of improved outcomes and faster immune reconstitution without serotherapy.[100,101] Targeted dosing of serotherapy shows improved outcomes when used during cord blood HSCT,[102] but a comparison of targeted serotherapy with no serotherapy has not been performed.

###### GVHD prophylaxis for haploidentical-donor HSCT

Early approaches using various intensities of GVHD prophylaxis and different types of T-cell depletion led to relatively poor rates of survival and high rates of GVHD when haploidentical donors were used.[103] The approach has changed dramatically with the use of posttransplant cyclophosphamide, both for bone marrow and PBSCs, leading to outcomes comparable to those for fully matched unrelated donors.[86]

The other widely used approach to haploidentical HSCT in pediatrics is T-cell receptor (TCR) alpha beta/CD19 depletion. Using this process, several pediatric groups have demonstrated outcomes similar to those for fully matched stem cell sources, with low rates of GVHD.[104-106] Studies that compare this method with posttransplant cyclophosphamide or other stem cell sources have not been performed. Other approaches to T-cell depletion (e.g., CD34+ isolation,[107] CD45RA depletion [108]) are used by some centers, but comparative studies with other approaches are not available.

Similar to unrelated-donor bone marrow and cord blood HSCT, outcomes improved after TCR alpha beta/CD19 depletion when rATG was targeted to specific pre- and post-HSCT exposures.[109]

##### Nutritional approaches to prevent GVHD

Other nonimmune approaches to prevent GVHD are emerging. In a double-blind randomized study, patients with low vitamin A levels received either one pretransplant dose of vitamin A or a placebo. Patients who received vitamin A had statistically less acute GVHD (grades II to IV), acute gastrointestinal GVHD, and chronic GVHD.[110]

##### Steroid-refractory acute GVHD

When significant acute GVHD occurs, first-line therapy is generally methylprednisolone.[111] Patients with acute GVHD who are resistant to this therapy have a poor prognosis. However, many patients respond to second-line agents (e.g., mycophenolate mofetil, infliximab, pentostatin, sirolimus, or extracorporeal photopheresis).[112] Ruxolitinib was approved in 2019 for the treatment of children aged 12 years and older with steroid-refractory acute GVHD, with an overall response rate of 55% and a complete response rate of 27% at day 28 after initiation of therapy. Comparative trials of these agents have not been performed, so a best option for steroid-refractory GVHD has not been identified.[113-115]

### References

Antin JH: Immune reconstitution: the major barrier to successful stem cell transplantation. Biol Blood Marrow Transplant 11 (2 Suppl 2): 43-5, 2005.15682176
Fry TJ, Mackall CL: Immune reconstitution following hematopoietic progenitor cell transplantation: challenges for the future. Bone Marrow Transplant 35 (Suppl 1): S53-7, 2005.15812532
Wingard JR, Majhail NS, Brazauskas R, et al.: Long-term survival and late deaths after allogeneic hematopoietic cell transplantation. J Clin Oncol 29 (16): 2230-9, 2011.21464398
Bunin N, Small T, Szabolcs P, et al.: NCI, NHLBI/PBMTC first international conference on late effects after pediatric hematopoietic cell transplantation: persistent immune deficiency in pediatric transplant survivors. Biol Blood Marrow Transplant 18 (1): 6-15, 2012.22100979
Burik JH, Freifeld AG: Infection in the severely immunocompromised patient. In: Abeloff MD, Armitage JO, Niederhuber JE, et al.: Clinical Oncology. 3rd ed. Elsevier, Churchill Livingstone, 2004, pp 941-56.
Tomblyn M, Chiller T, Einsele H, et al.: Guidelines for preventing infectious complications among hematopoietic cell transplantation recipients: a global perspective. Biol Blood Marrow Transplant 15 (10): 1143-238, 2009.19747629
Centers for Disease Control and Prevention, Infectious Disease Society of America, American Society of Blood and Marrow Transplantation: Guidelines for preventing opportunistic infections among hematopoietic stem cell transplant recipients. MMWR Recomm Rep 49 (RR-10): 1-125, CE1-7, 2000.11718124
Levy ER, Musick L, Zinter MS, et al.: Safe and Effective Prophylaxis with Bimonthly Intravenous Pentamidine in the Pediatric Hematopoietic Stem Cell Transplant Population. Pediatr Infect Dis J 35 (2): 135-41, 2016.26418240
Russo D, Schmitt M, Pilorge S, et al.: Efficacy and safety of extended duration letermovir prophylaxis in recipients of haematopoietic stem-cell transplantation at risk of cytomegalovirus infection: a multicentre, randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Haematol 11 (2): e127-e135, 2024.38142695
Galaverna F, Baccelli F, Zama D, et al.: Letermovir for Cytomegalovirus infection in pediatric patients undergoing allogenic hematopoietic stem cell transplantation: a real-life study by the Infectious Diseases Working Group of Italian Association of Pediatric Hematology-Oncology (AIEOP). Bone Marrow Transplant 59 (4): 505-512, 2024.38272999
Hiwarkar P, Amrolia P, Sivaprakasam P, et al.: Brincidofovir is highly efficacious in controlling adenoviremia in pediatric recipients of hematopoietic cell transplant. Blood 129 (14): 2033-2037, 2017.28153824
Wychera C, Imlay HN, Duke ER, et al.: BK Viremia and Changes in Estimated Glomerular Filtration Rate in Children and Young Adults after Hematopoietic Cell Transplantation. Transplant Cell Ther 29 (3): 187.e1-187.e8, 2023.36494016
Rubin LG, Levin MJ, Ljungman P, et al.: 2013 IDSA clinical practice guideline for vaccination of the immunocompromised host. Clin Infect Dis 58 (3): e44-100, 2014.24311479
Cordonnier C, Einarsdottir S, Cesaro S, et al.: Vaccination of haemopoietic stem cell transplant recipients: guidelines of the 2017 European Conference on Infections in Leukaemia (ECIL 7). Lancet Infect Dis 19 (6): e200-e212, 2019.30744963
Miller P, Patel SR, Skinner R, et al.: Joint consensus statement on the vaccination of adult and paediatric haematopoietic stem cell transplant recipients: Prepared on behalf of the British society of blood and marrow transplantation and cellular therapy (BSBMTCT), the Children's cancer and Leukaemia Group (CCLG), and British Infection Association (BIA). J Infect 86 (1): 1-8, 2023.36400155
Hill JA, Martens MJ, Young JH, et al.: SARS-CoV-2 vaccination in the first year after allogeneic hematopoietic cell transplant: a prospective, multicentre, observational study. EClinicalMedicine 59: 101983, 2023.37128256
Kumar D, Chen MH, Welsh B, et al.: A randomized, double-blind trial of pneumococcal vaccination in adult allogeneic stem cell transplant donors and recipients. Clin Infect Dis 45 (12): 1576-82, 2007.18190318
Reiss U, Cowan M, McMillan A, et al.: Hepatic venoocclusive disease in blood and bone marrow transplantation in children and young adults: incidence, risk factors, and outcome in a cohort of 241 patients. J Pediatr Hematol Oncol 24 (9): 746-50, 2002.12468917
Cesaro S, Pillon M, Talenti E, et al.: A prospective survey on incidence, risk factors and therapy of hepatic veno-occlusive disease in children after hematopoietic stem cell transplantation. Haematologica 90 (10): 1396-404, 2005.16219577
Bearman SI: The syndrome of hepatic veno-occlusive disease after marrow transplantation. Blood 85 (11): 3005-20, 1995.7756636 95276230
Myers KC, Dandoy C, El-Bietar J, et al.: Veno-occlusive disease of the liver in the absence of elevation in bilirubin in pediatric patients after hematopoietic stem cell transplantation. Biol Blood Marrow Transplant 21 (2): 379-81, 2015.25300869
Carreras E, Dufour C, Mohty M, et al., eds.: The EBMT Handbook: Hematopoietic Stem Cell Transplantation and Cellular Therapies. 7th edition. Cham (CH): Springer, 2019. Available online (https://www.ncbi.nlm.nih.gov/books/NBK553942/). Last accessed May 7, 2024.
Jones RJ, Lee KS, Beschorner WE, et al.: Venoocclusive disease of the liver following bone marrow transplantation. Transplantation 44 (6): 778-83, 1987.3321587
Mohty M, Malard F, Abecassis M, et al.: Revised diagnosis and severity criteria for sinusoidal obstruction syndrome/veno-occlusive disease in adult patients: a new classification from the European Society for Blood and Marrow Transplantation. Bone Marrow Transplant 51 (7): 906-12, 2016.27183098
Corbacioglu S, Carreras E, Ansari M, et al.: Diagnosis and severity criteria for sinusoidal obstruction syndrome/veno-occlusive disease in pediatric patients: a new classification from the European society for blood and marrow transplantation. Bone Marrow Transplant 53 (2): 138-145, 2018.28759025
Cairo MS, Cooke KR, Lazarus HM, et al.: Modified diagnostic criteria, grading classification and newly elucidated pathophysiology of hepatic SOS/VOD after haematopoietic cell transplantation. Br J Haematol 190 (6): 822-836, 2020.32133623
Ruutu T, Eriksson B, Remes K, et al.: Ursodeoxycholic acid for the prevention of hepatic complications in allogeneic stem cell transplantation. Blood 100 (6): 1977-83, 2002.12200355
Myers KC, Lawrence J, Marsh RA, et al.: High-dose methylprednisolone for veno-occlusive disease of the liver in pediatric hematopoietic stem cell transplantation recipients. Biol Blood Marrow Transplant 19 (3): 500-3, 2013.23211838
Richardson PG, Murakami C, Jin Z, et al.: Multi-institutional use of defibrotide in 88 patients after stem cell transplantation with severe veno-occlusive disease and multisystem organ failure: response without significant toxicity in a high-risk population and factors predictive of outcome. Blood 100 (13): 4337-43, 2002.12393437
Corbacioglu S, Kernan N, Lehmann L, et al.: Defibrotide for the treatment of hepatic veno-occlusive disease in children after hematopoietic stem cell transplantation. Expert Rev Hematol 5 (3): 291-302, 2012.22780209
Richardson PG, Soiffer RJ, Antin JH, et al.: Defibrotide for the treatment of severe hepatic veno-occlusive disease and multiorgan failure after stem cell transplantation: a multicenter, randomized, dose-finding trial. Biol Blood Marrow Transplant 16 (7): 1005-17, 2010.20167278
Dignan FL, Wynn RF, Hadzic N, et al.: BCSH/BSBMT guideline: diagnosis and management of veno-occlusive disease (sinusoidal obstruction syndrome) following haematopoietic stem cell transplantation. Br J Haematol 163 (4): 444-57, 2013.24102514
Strouse C, Richardson P, Prentice G, et al.: Defibrotide for Treatment of Severe Veno-Occlusive Disease in Pediatrics and Adults: An Exploratory Analysis Using Data from the Center for International Blood and Marrow Transplant Research. Biol Blood Marrow Transplant 22 (7): 1306-1312, 2016.27108694
Richardson PG, Smith AR, Triplett BM, et al.: Earlier defibrotide initiation post-diagnosis of veno-occlusive disease/sinusoidal obstruction syndrome improves Day +100 survival following haematopoietic stem cell transplantation. Br J Haematol 178 (1): 112-118, 2017.28444784
Corbacioglu S, Cesaro S, Faraci M, et al.: Defibrotide for prophylaxis of hepatic veno-occlusive disease in paediatric haemopoietic stem-cell transplantation: an open-label, phase 3, randomised controlled trial. Lancet 379 (9823): 1301-9, 2012.22364685
Grupp SA, Corbacioglu S, Kang HJ, et al.: Defibrotide plus best standard of care compared with best standard of care alone for the prevention of sinusoidal obstruction syndrome (HARMONY): a randomised, multicentre, phase 3 trial. Lancet Haematol 10 (5): e333-e345, 2023.37001534
Ruutu T, Juvonen E, Remberger M, et al.: Improved survival with ursodeoxycholic acid prophylaxis in allogeneic stem cell transplantation: long-term follow-up of a randomized study. Biol Blood Marrow Transplant 20 (1): 135-8, 2014.24141008
Bajwa RPS, Mahadeo KM, Taragin BH, et al.: Consensus Report by Pediatric Acute Lung Injury and Sepsis Investigators and Pediatric Blood and Marrow Transplantation Consortium Joint Working Committees: Supportive Care Guidelines for Management of Veno-Occlusive Disease in Children and Adolescents, Part 1: Focus on Investigations, Prophylaxis, and Specific Treatment. Biol Blood Marrow Transplant 23 (11): 1817-1825, 2017.28754544
Mahadeo KM, McArthur J, Adams RH, et al.: Consensus Report by the Pediatric Acute Lung Injury and Sepsis Investigators and Pediatric Blood and Marrow Transplant Consortium Joint Working Committees on Supportive Care Guidelines for Management of Veno-Occlusive Disease in Children and Adolescents: Part 2-Focus on Ascites, Fluid and Electrolytes, Renal, and Transfusion Issues. Biol Blood Marrow Transplant 23 (12): 2023-2033, 2017.28823876
Ovchinsky N, Frazier W, Auletta JJ, et al.: Consensus Report by the Pediatric Acute Lung Injury and Sepsis Investigators and Pediatric Blood and Marrow Transplantation Consortium Joint Working Committees on Supportive Care Guidelines for Management of Veno-Occlusive Disease in Children and Adolescents, Part 3: Focus on Cardiorespiratory Dysfunction, Infections, Liver Dysfunction, and Delirium. Biol Blood Marrow Transplant 24 (2): 207-218, 2018.28870776
Jodele S, Licht C, Goebel J, et al.: Abnormalities in the alternative pathway of complement in children with hematopoietic stem cell transplant-associated thrombotic microangiopathy. Blood 122 (12): 2003-7, 2013.23814021
Cutler C, Henry NL, Magee C, et al.: Sirolimus and thrombotic microangiopathy after allogeneic hematopoietic stem cell transplantation. Biol Blood Marrow Transplant 11 (7): 551-7, 2005.15983555
Schoettler ML, Carreras E, Cho B, et al.: Harmonizing Definitions for Diagnostic Criteria and Prognostic Assessment of Transplantation-Associated Thrombotic Microangiopathy: A Report on Behalf of the European Society for Blood and Marrow Transplantation, American Society for Transplantation and Cellular Therapy, Asia-Pacific Blood and Marrow Transplantation Group, and Center for International Blood and Marrow Transplant Research. Transplant Cell Ther 29 (3): 151-163, 2023.36442770
Jodele S, Dandoy CE, Aguayo-Hiraldo P, et al.: A prospective multi-institutional study of eculizumab to treat high-risk stem cell transplantation-associated TMA. Blood 143 (12): 1112-1123, 2024.37946262
Jodele S, Davies SM, Lane A, et al.: Diagnostic and risk criteria for HSCT-associated thrombotic microangiopathy: a study in children and young adults. Blood 124 (4): 645-53, 2014.24876561
Dandoy CE, Rotz S, Alonso PB, et al.: A pragmatic multi-institutional approach to understanding transplant-associated thrombotic microangiopathy after stem cell transplant. Blood Adv 5 (1): 1-11, 2021.33570619
Jodele S, Fukuda T, Vinks A, et al.: Eculizumab therapy in children with severe hematopoietic stem cell transplantation-associated thrombotic microangiopathy. Biol Blood Marrow Transplant 20 (4): 518-25, 2014.24370861
Jodele S, Fukuda T, Mizuno K, et al.: Variable Eculizumab Clearance Requires Pharmacodynamic Monitoring to Optimize Therapy for Thrombotic Microangiopathy after Hematopoietic Stem Cell Transplantation. Biol Blood Marrow Transplant 22 (2): 307-315, 2016.26456258
Schoettler M, Lehmann L, Li A, et al.: Thrombotic Microangiopathy Following Pediatric Autologous Hematopoietic Cell Transplantation: A Report of Significant End-Organ Dysfunction in Eculizumab-Treated Survivors. Biol Blood Marrow Transplant 25 (5): e163-e168, 2019.30639820
Jodele S, Dandoy CE, Lane A, et al.: Complement blockade for TA-TMA: lessons learned from a large pediatric cohort treated with eculizumab. Blood 135 (13): 1049-1057, 2020.31932840
Svec P, Elfeky R, Galimard JE, et al.: Use of eculizumab in children with allogeneic haematopoietic stem cell transplantation associated thrombotic microangiopathy - a multicentre retrospective PDWP and IEWP EBMT study. Bone Marrow Transplant 58 (2): 129-141, 2023.36333550
Benítez Carabante MI, Bueno D, Alonso García L, et al.: Use of Eculizumab in Pediatric Patients with High-Risk Transplantation-Associated Thrombotic Microangiopathy: Outcomes and Risk Factors Associated with Response and Survival. A Retrospective Study on Behalf of the Spanish Group for Hematopoietic Transplantation and Cellular Therapy (GETH-TC). Transplant Cell Ther 30 (6): 601.e1-601.e13, 2024.38521410
Kantrow SP, Hackman RC, Boeckh M, et al.: Idiopathic pneumonia syndrome: changing spectrum of lung injury after marrow transplantation. Transplantation 63 (8): 1079-86, 1997.9133468
Clark JG, Hansen JA, Hertz MI, et al.: NHLBI workshop summary. Idiopathic pneumonia syndrome after bone marrow transplantation. Am Rev Respir Dis 147 (6 Pt 1): 1601-6, 1993.8503576
Yanik GA, Ho VT, Levine JE, et al.: The impact of soluble tumor necrosis factor receptor etanercept on the treatment of idiopathic pneumonia syndrome after allogeneic hematopoietic stem cell transplantation. Blood 112 (8): 3073-81, 2008.18664626
Yanik GA, Grupp SA, Pulsipher MA, et al.: TNF-receptor inhibitor therapy for the treatment of children with idiopathic pneumonia syndrome. A joint Pediatric Blood and Marrow Transplant Consortium and Children's Oncology Group Study (ASCT0521). Biol Blood Marrow Transplant 21 (1): 67-73, 2015.25270958
Szanto CL, Langenhorst J, de Koning C, et al.: Predictors for Autoimmune Cytopenias after Allogeneic Hematopoietic Cell Transplantation in Children. Biol Blood Marrow Transplant 26 (1): 114-122, 2020.31344451
Koo J, Giller RH, Quinones R, et al.: Autoimmune cytopenias following allogeneic hematopoietic stem cell transplant in pediatric patients: Response to therapy and late effects. Pediatr Blood Cancer 67 (9): e28591, 2020.32658382
O'Brien TA, Eastlund T, Peters C, et al.: Autoimmune haemolytic anaemia complicating haematopoietic cell transplantation in paediatric patients: high incidence and significant mortality in unrelated donor transplants for non-malignant diseases. Br J Haematol 127 (1): 67-75, 2004.15384979
Cuvelier GDE, Schoettler M, Buxbaum NP, et al.: Toward a Better Understanding of the Atypical Features of Chronic Graft-Versus-Host Disease: A Report from the 2020 National Institutes of Health Consensus Project Task Force. Transplant Cell Ther 28 (8): 426-445, 2022.35662591
Hillier K, Harris EM, Berbert L, et al.: Characteristics and outcomes of autoimmune hemolytic anemia after pediatric allogeneic stem cell transplant. Pediatr Blood Cancer 69 (1): e29410, 2022.34709706
Even-Or E, Schejter YD, NaserEddin A, et al.: Autoimmune Cytopenias Post Hematopoietic Stem Cell Transplantation in Pediatric Patients With Osteopetrosis and Other Nonmalignant Diseases. Front Immunol 13: 879994, 2022.35693771
Gerritsen EJ, Stam ED, Hermans J, et al.: Risk factors for developing EBV-related B cell lymphoproliferative disorders (BLPD) after non-HLA-identical BMT in children. Bone Marrow Transplant 18 (2): 377-82, 1996.8864449
Shapiro RS, McClain K, Frizzera G, et al.: Epstein-Barr virus associated B cell lymphoproliferative disorders following bone marrow transplantation. Blood 71 (5): 1234-43, 1988.2833957
Brunstein CG, Weisdorf DJ, DeFor T, et al.: Marked increased risk of Epstein-Barr virus-related complications with the addition of antithymocyte globulin to a nonmyeloablative conditioning prior to unrelated umbilical cord blood transplantation. Blood 108 (8): 2874-80, 2006.16804113
Blaes AH, Cao Q, Wagner JE, et al.: Monitoring and preemptive rituximab therapy for Epstein-Barr virus reactivation after antithymocyte globulin containing nonmyeloablative conditioning for umbilical cord blood transplantation. Biol Blood Marrow Transplant 16 (2): 287-91, 2010.19835968
Kuehnle I, Huls MH, Liu Z, et al.: CD20 monoclonal antibody (rituximab) for therapy of Epstein-Barr virus lymphoma after hemopoietic stem-cell transplantation. Blood 95 (4): 1502-5, 2000.10666232 20129613
Styczynski J, Gil L, Tridello G, et al.: Response to rituximab-based therapy and risk factor analysis in Epstein Barr Virus-related lymphoproliferative disorder after hematopoietic stem cell transplant in children and adults: a study from the Infectious Diseases Working Party of the European Group for Blood and Marrow Transplantation. Clin Infect Dis 57 (6): 794-802, 2013.23771985
Liu Z, Savoldo B, Huls H, et al.: Epstein-Barr virus (EBV)-specific cytotoxic T lymphocytes for the prevention and treatment of EBV-associated post-transplant lymphomas. Recent Results Cancer Res 159: 123-33, 2002.11785836
Bollard CM, Heslop HE: T cells for viral infections after allogeneic hematopoietic stem cell transplant. Blood 127 (26): 3331-40, 2016.27207801
Keller MD, Hanley PJ, Chi YY, et al.: Antiviral cellular therapy for enhancing T-cell reconstitution before or after hematopoietic stem cell transplantation (ACES): a two-arm, open label phase II interventional trial of pediatric patients with risk factor assessment. Nat Commun 15 (1): 3258, 2024.38637498
Ferrara JL, Levine JE, Reddy P, et al.: Graft-versus-host disease. Lancet 373 (9674): 1550-61, 2009.19282026
Przepiorka D, Weisdorf D, Martin P, et al.: 1994 Consensus Conference on Acute GVHD Grading. Bone Marrow Transplant 15 (6): 825-8, 1995.7581076
Harris AC, Young R, Devine S, et al.: International, Multicenter Standardization of Acute Graft-versus-Host Disease Clinical Data Collection: A Report from the Mount Sinai Acute GVHD International Consortium. Biol Blood Marrow Transplant 22 (1): 4-10, 2016.26386318
Levine JE, Braun TM, Harris AC, et al.: A prognostic score for acute graft-versus-host disease based on biomarkers: a multicentre study. Lancet Haematol 2 (1): e21-9, 2015.26687425
Srinagesh HK, Özbek U, Kapoor U, et al.: The MAGIC algorithm probability is a validated response biomarker of treatment of acute graft-versus-host disease. Blood Adv 3 (23): 4034-4042, 2019.31816061
Luznik L, O'Donnell PV, Fuchs EJ: Post-transplantation cyclophosphamide for tolerance induction in HLA-haploidentical bone marrow transplantation. Semin Oncol 39 (6): 683-93, 2012.23206845
Nunes NS, Kanakry CG: Mechanisms of Graft-versus-Host Disease Prevention by Post-transplantation Cyclophosphamide: An Evolving Understanding. Front Immunol 10: 2668, 2019.31849930
Watkins B, Williams KM: Controversies and expectations for the prevention of GVHD: A biological and clinical perspective. Front Immunol 13: 1057694, 2022.36505500
Locatelli F, Zecca M, Rondelli R, et al.: Graft versus host disease prophylaxis with low-dose cyclosporine-A reduces the risk of relapse in children with acute leukemia given HLA-identical sibling bone marrow transplantation: results of a randomized trial. Blood 95 (5): 1572-9, 2000.10688810
Storb R, Deeg HJ, Pepe M, et al.: Methotrexate and cyclosporine versus cyclosporine alone for prophylaxis of graft-versus-host disease in patients given HLA-identical marrow grafts for leukemia: long-term follow-up of a controlled trial. Blood 73 (6): 1729-34, 1989.2653461
Pulsipher MA, Langholz B, Wall DA, et al.: The addition of sirolimus to tacrolimus/methotrexate GVHD prophylaxis in children with ALL: a phase 3 Children's Oncology Group/Pediatric Blood and Marrow Transplant Consortium trial. Blood 123 (13): 2017-25, 2014.24497539
Ueda Oshima M, Storer BE, Qiu H, et al.: Long-term Outcomes with Nonmyeloablative HLA-Identical Related Hematopoietic Cell Transplantation Using Tacrolimus and Mycophenolate Mofetil for Graft-versus-Host Disease Prophylaxis. Transplant Cell Ther 27 (2): 163.e1-163.e7, 2021.33830025
Mehta RS, Saliba RM, Rondon G, et al.: Post-Transplantation Cyclophosphamide Versus Tacrolimus and Methotrexate Graft-Versus-Host Disease Prophylaxis for HLA-Matched Donor Transplantation. Transplant Cell Ther 28 (10): 695.e1-695.e10, 2022.35902049
Borovkova AS, Paina OV, Semenova EV, et al.: Post-transplant сyclophosphamide after matched donor hematopoietic stem cell transplantation in children with acute leukemia. Clin Transplant 38 (1): e15181, 2024.37922213
Fierro-Pineda JC, Tsai HL, Blackford A, et al.: Prospective PTCTC trial of myeloablative haplo-BMT with posttransplant cyclophosphamide for pediatric acute leukemias. Blood Adv 7 (18): 5639-5648, 2023.37257193
McCurdy SR, Kanakry CG, Tsai HL, et al.: Development of Grade II Acute Graft-versus-Host Disease Is Associated with Improved Survival after Myeloablative HLA-Matched Bone Marrow Transplantation using Single-Agent Post-Transplant Cyclophosphamide. Biol Blood Marrow Transplant 25 (6): 1128-1135, 2019.30599208
Kanakry CG, O'Donnell PV, Furlong T, et al.: Multi-institutional study of post-transplantation cyclophosphamide as single-agent graft-versus-host disease prophylaxis after allogeneic bone marrow transplantation using myeloablative busulfan and fludarabine conditioning. J Clin Oncol 32 (31): 3497-505, 2014.25267759
Soiffer RJ, Kim HT, McGuirk J, et al.: Prospective, Randomized, Double-Blind, Phase III Clinical Trial of Anti-T-Lymphocyte Globulin to Assess Impact on Chronic Graft-Versus-Host Disease-Free Survival in Patients Undergoing HLA-Matched Unrelated Myeloablative Hematopoietic Cell Transplantation. J Clin Oncol 35 (36): 4003-4011, 2017.29040031
Socié G, Schmoor C, Bethge WA, et al.: Chronic graft-versus-host disease: long-term results from a randomized trial on graft-versus-host disease prophylaxis with or without anti-T-cell globulin ATG-Fresenius. Blood 117 (23): 6375-82, 2011.21467544
Kröger N, Solano C, Wolschke C, et al.: Antilymphocyte Globulin for Prevention of Chronic Graft-versus-Host Disease. N Engl J Med 374 (1): 43-53, 2016.26735993
Admiraal R, Nierkens S, Bierings MB, et al.: Individualised dosing of anti-thymocyte globulin in paediatric unrelated allogeneic haematopoietic stem-cell transplantation (PARACHUTE): a single-arm, phase 2 clinical trial. Lancet Haematol 9 (2): e111-e120, 2022.35114150
Admiraal R, van Kesteren C, Jol-van der Zijde CM, et al.: Association between anti-thymocyte globulin exposure and CD4+ immune reconstitution in paediatric haemopoietic cell transplantation: a multicentre, retrospective pharmacodynamic cohort analysis. Lancet Haematol 2 (5): e194-203, 2015.26688094
Watkins B, Qayed M, McCracken C, et al.: Phase II Trial of Costimulation Blockade With Abatacept for Prevention of Acute GVHD. J Clin Oncol 39 (17): 1865-1877, 2021.33449816
Peters C, Schrappe M, von Stackelberg A, et al.: Stem-cell transplantation in children with acute lymphoblastic leukemia: A prospective international multicenter trial comparing sibling donors with matched unrelated donors-The ALL-SCT-BFM-2003 trial. J Clin Oncol 33 (11): 1265-74, 2015.25753432
Kean LS, Burns LJ, Kou TD, et al.: Abatacept for acute graft-versus-host disease prophylaxis after unrelated donor hematopoietic cell transplantation. Blood 144 (17): 1834-1845, 2024.39028876
Shaw BE, Jimenez-Jimenez AM, Burns LJ, et al.: National Marrow Donor Program-Sponsored Multicenter, Phase II Trial of HLA-Mismatched Unrelated Donor Bone Marrow Transplantation Using Post-Transplant Cyclophosphamide. J Clin Oncol 39 (18): 1971-1982, 2021.33905264
Wagner JE, Eapen M, Carter S, et al.: One-unit versus two-unit cord-blood transplantation for hematologic cancers. N Engl J Med 371 (18): 1685-94, 2014.25354103
Eapen M, Kurtzberg J, Zhang MJ, et al.: Umbilical Cord Blood Transplantation in Children with Acute Leukemia: Impact of Conditioning on Transplantation Outcomes. Biol Blood Marrow Transplant 23 (10): 1714-1721, 2017.28684372
Lindemans CA, Chiesa R, Amrolia PJ, et al.: Impact of thymoglobulin prior to pediatric unrelated umbilical cord blood transplantation on immune reconstitution and clinical outcome. Blood 123 (1): 126-32, 2014.24184682
Admiraal R, Lindemans CA, van Kesteren C, et al.: Excellent T-cell reconstitution and survival depend on low ATG exposure after pediatric cord blood transplantation. Blood 128 (23): 2734-2741, 2016.27702800
Admiraal R, Versluijs AB, Huitema ADR, et al.: High-dose individualized antithymocyte globulin with therapeutic drug monitoring in high-risk cord blood transplant. Cytotherapy 26 (6): 599-605, 2024.38466262
Pulsipher MA: Haplo is the new black. Blood 124 (5): 675-6, 2014.25082865
Pulsipher MA, Ahn KW, Bunin NJ, et al.: KIR-favorable TCR-αβ/CD19-depleted haploidentical HCT in children with ALL/AML/MDS: primary analysis of the PTCTC ONC1401 trial. Blood 140 (24): 2556-2572, 2022.35776909
Bertaina A, Zecca M, Buldini B, et al.: Unrelated donor vs HLA-haploidentical α/β T-cell- and B-cell-depleted HSCT in children with acute leukemia. Blood 132 (24): 2594-2607, 2018.30348653
Merli P, Algeri M, Galaverna F, et al.: TCRαβ/CD19 cell-depleted HLA-haploidentical transplantation to treat pediatric acute leukemia: updated final analysis. Blood 143 (3): 279-289, 2024.37738655
Mehta PA, Davies SM, Leemhuis T, et al.: Radiation-free, alternative-donor HCT for Fanconi anemia patients: results from a prospective multi-institutional study. Blood 129 (16): 2308-2315, 2017.28179273
Bleakley M, Heimfeld S, Loeb KR, et al.: Outcomes of acute leukemia patients transplanted with naive T cell-depleted stem cell grafts. J Clin Invest 125 (7): 2677-89, 2015.26053664
Dvorak CC, Long-Boyle JR, Holbrook-Brown L, et al.: Effect of rabbit ATG PK on outcomes after TCR-αβ/CD19-depleted pediatric haploidentical HCT for hematologic malignancy. Blood Adv 8 (23): 6003-6014, 2024.39042892
Khandelwal P, Langenberg L, Luebbering N, et al.: A randomized phase 2 trial of oral vitamin A for graft-versus-host disease in children and young adults. Blood 143 (12): 1181-1192, 2024.38227933
Jacobsohn DA: Acute graft-versus-host disease in children. Bone Marrow Transplant 41 (2): 215-21, 2008.17934526
Deeg HJ: How I treat refractory acute GVHD. Blood 109 (10): 4119-26, 2007.17234737
Jagasia M, Perales MA, Schroeder MA, et al.: Ruxolitinib for the treatment of steroid-refractory acute GVHD (REACH1): a multicenter, open-label phase 2 trial. Blood 135 (20): 1739-1749, 2020.32160294
Laisne L, Neven B, Dalle JH, et al.: Ruxolitinib in children with steroid-refractory acute graft-versus-host disease: A retrospective multicenter study of the pediatric group of SFGM-TC. Pediatr Blood Cancer 67 (9): e28233, 2020.32614145
Locatelli F, Kang HJ, Bruno B, et al.: Ruxolitinib for pediatric patients with treatment-naïve and steroid-refractory acute graft-versus-host disease: the REACH4 study. Blood 144 (20): 2095-2106, 2024.39046767

## Chronic Graft-Versus-Host Disease (GVHD)

Chronic GVHD is a syndrome that can involve a single organ system or several organ systems, with clinical features resembling an autoimmune disease.[1,2] Chronic GVHD is usually first noted 2 to 12 months after hematopoietic stem cell transplant (HSCT). Traditionally, symptoms occurring more than 100 days after HSCT were considered chronic GVHD, and symptoms occurring sooner than 100 days after HSCT were considered acute GVHD. Because some approaches to HSCT can lead to late-onset acute GVHD, and manifestations that are diagnostic for chronic GVHD can occur sooner than 100 days post-HSCT, the following three distinct types of chronic GVHD have been described:

- Classic chronic GVHD: Occurs with diagnostic and/or distinct features of chronic GVHD (see Tables 6–10) after a previous history of resolved acute GVHD.
- Overlap syndrome: An ongoing GVHD process when manifestations diagnostic for chronic GVHD occur while symptoms of acute GVHD persist.
- De novo chronic GVHD: New-onset GVHD generally occurring at least 2 months after transplant, with diagnostic and/or distinct features of chronic GVHD and no history or features of acute GVHD.

### Organ Manifestations of Chronic GVHD

The diagnosis of chronic GVHD is based on clinical features (at least one diagnostic clinical sign, e.g., poikiloderma) or distinctive manifestations complemented by relevant tests (e.g., dry eye with positive results of a Schirmer test).[3]

Commonly involved tissues include the skin, eyes, mouth, hair, joints, liver, and gastrointestinal tract. Other tissues such as lungs, nails, muscles, urogenital system, and nervous system may also be involved. Tables 6 to 10 list organ manifestations of chronic GVHD, including a description of findings that are sufficient to establish the diagnosis of chronic GVHD. Biopsies of affected sites may be needed to confirm the diagnosis.[4]

Common skin manifestations include alterations in pigmentation, texture, elasticity, and thickness, with papules, plaques, or follicular changes. Patient-reported symptoms include dry skin, itching, limited mobility, rash, sores, or changes in coloring or texture. Generalized scleroderma may lead to severe joint contractures and debility. Associated hair loss and nail changes are common. Other important symptoms that should be assessed include dry eyes and oral changes such as atrophy, ulcers, and lichen planus. In addition, joint stiffness along with restricted range of motion, weight loss, nausea, difficulty swallowing, and diarrhea should be noted.

Table 6. Chronic Graft-Versus-Host Disease (GVHD) Symptoms in the Skin, Nails, Scalp, and Body Hair^a^

Organ or Site | Diagnostic^b^ | Distinctive^c^ | Other Features^d^ | Common (Seen With Both Acute and Chronic GVHD)
Skin | Poikiloderma | Depigmentation | Sweat impairment | Pruritus
Skin | Lichen planus–like features | Depigmentation | Ichthyosis | Erythema
Skin | Sclerotic features | Depigmentation | Keratosis pilaris | Maculopapular rash
Skin | Morphea-like features | Depigmentation | Hypopigmentation | Maculopapular rash
Skin | Lichen sclerosus–like features | Depigmentation | Hyperpigmentation | Maculopapular rash
Nails | | Dystrophy
Nails | | Longitudinal ridging, splitting, or brittle features
Nails | | Onycholysis
Nails | | Pterygium unguis
Nails | | Nail loss (usually symmetric; affects most nails)^e^
Scalp and body hair | | New onset of scarring or nonscarring scalp alopecia (after recovery from chemoradiotherapy) | Thinning scalp hair, typically patchy, coarse, or dull (not explained by endocrine or other causes)
Scalp and body hair | | Scaling, papulosquamous lesions | Premature gray hair

^a^Reprinted from Biology of Blood and Marrow Transplantation (https://www.sciencedirect.com/journal/biology-of-blood-and-marrow-transplantation), Volume 11 (Issue 12), Alexandra H. Filipovich, Daniel Weisdorf, Steven Pavletic, Gerard Socie, John R. Wingard, Stephanie J. Lee, Paul Martin, Jason Chien, Donna Przepiorka, Daniel Couriel, Edward W. Cowen, Patricia Dinndorf, Ann Farrell, Robert Hartzman, Jean Henslee-Downey, David Jacobsohn, George McDonald, Barbara Mittleman, J. Douglas Rizzo, Michael Robinson, Mark Schubert, Kirk Schultz, Howard Shulman, Maria Turner, Georgia Vogelsang, Mary E.D. Flowers, National Institutes of Health Consensus Development Project on Criteria for Clinical Trials in Chronic Graft-versus-Host Disease: I. Diagnosis and Staging Working Group Report, Pages 945-956, Copyright 2005, with permission from American Society for Blood and Marrow Transplantation and Elsevier.[3]

^b^Sufficient to establish a diagnosis of chronic GVHD.

^c^Seen in chronic GVHD but insufficient alone to establish a diagnosis of chronic GVHD.

^d^Can be acknowledged as part of the chronic GVHD symptomatology if the diagnosis is confirmed.

^e^In all cases, infection, drug effects, malignancy, or other causes must be excluded.

^f^Diagnosis of chronic GVHD requires biopsy or radiology confirmation (or Schirmer test for eyes).

Table 7. Chronic Graft-Versus-Host Disease (GVHD) Symptoms in the Mouth and GI Tract^a^

Organ or Site | Diagnostic^b^ | Distinctive^c^ | Other Features^d^ | Common (Seen With Both Acute and Chronic GVHD)
Mouth | Lichen-type features | Xerostomia | | Gingivitis
Mouth | Hyperkeratotic plaques | Mucocele | | Mucositis
Mouth | Restriction of mouth opening from sclerosis | Pseudomembranes^e^ | | Erythema
Mouth | Restriction of mouth opening from sclerosis | Mucosal atrophy | | Pain
Mouth | Restriction of mouth opening from sclerosis | Ulcers^e^ | | Pain
GI Tract | Esophageal web | | Exocrine pancreatic insufficiency | Anorexia
GI Tract | Strictures or stenosis in the upper to mid third of the esophagus^e^ | | Exocrine pancreatic insufficiency | Nausea
GI Tract | Strictures or stenosis in the upper to mid third of the esophagus^e^ | | Exocrine pancreatic insufficiency | Vomiting
GI Tract | Strictures or stenosis in the upper to mid third of the esophagus^e^ | | Exocrine pancreatic insufficiency | Diarrhea
GI Tract | Strictures or stenosis in the upper to mid third of the esophagus^e^ | | Exocrine pancreatic insufficiency | Weight loss
GI Tract | Strictures or stenosis in the upper to mid third of the esophagus^e^ | | Exocrine pancreatic insufficiency | Failure to thrive (infants and children)
GI Tract | Strictures or stenosis in the upper to mid third of the esophagus^e^ | | Exocrine pancreatic insufficiency | Total bilirubin, alkaline phosphatase >2 × ULN^e^
GI Tract | Strictures or stenosis in the upper to mid third of the esophagus^e^ | | Exocrine pancreatic insufficiency | ALT or AST >2 × ULN^e^

ALT = alanine aminotransferase; AST = aspartate aminotransferase; GI = gastrointestinal; ULN = upper limit of normal.

^a–e^See definitions in Table 6.

Table 8. Chronic Graft-Versus-Host Disease (GVHD) Symptoms in the Eyes^a^

Organ or Site | Diagnostic^b^ | Distinctive^c^ | Other Features^d^ | Common (Seen With Both Acute and Chronic GVHD)
Eyes | | New onset dry, gritty, or painful eyes^f^ | Blepharitis (erythema of the eyelids with edema)
Eyes | | Cicatricial conjunctivitis | Blepharitis (erythema of the eyelids with edema)
Eyes | | Keratoconjunctivitis sicca^f^ | Photophobia
Eyes | | Confluent areas of punctate keratopathy | Periorbital hyperpigmentation

^a–f^See definitions in Table 6.

Table 9. Chronic Graft-Versus-Host Disease (GVHD) Symptoms in the Genitalia^a^

Organ or Site | Diagnostic^b^ | Distinctive^c^ | Other Features^d^ | Common (Seen With Both Acute and Chronic GVHD)
Genitalia | Lichen planus–like features | Erosions^e^
Genitalia | Vaginal scarring or stenosis | Fissures^e^
Genitalia | Vaginal scarring or stenosis | Ulcers^e^

^a–e^See definitions in Table 6.

Table 10. Chronic Graft-Versus-Host Disease (GVHD) Symptoms in the Lung, Muscles, Fascia, Joints, Hematopoietic and Immune Systems, and Other Symptoms^a^

Organ or Site | Diagnostic^b^ | Distinctive^c^ | Other Features^d^ | Common (Seen With Both Acute and Chronic GVHD)
Lung | Bronchiolitis obliterans diagnosed with lung biopsy | Bronchiolitis obliterans diagnosed with PFTs and radiology^f ^ | | BOOP
Muscles, fascia, joints | Fasciitis | Myositis or polymyositis^f^ | Edema
Muscles, fascia, joints | Fasciitis | Myositis or polymyositis^f^ | Muscle cramps
Muscles, fascia, joints | Fasciitis | Myositis or polymyositis^f^ | Arthralgia or arthritis
Hematopoietic and immune | | | Thrombocytopenia
Hematopoietic and immune | | | Eosinophilia
Hematopoietic and immune | | | Lymphopenia
Hematopoietic and immune | | | Hypo- or hypergammaglobulinemia
Hematopoietic and immune | | | Autoantibodies (AIHA and ITP)
Other | | | Pericardial or pleural effusions
Other | | | Ascites
Other | | | Peripheral neuropathy
Other | | | Nephrotic syndrome
Other | | | Myasthenia gravis
Other | | | Cardiac conduction abnormality or cardiomyopathy

AIHA = autoimmune hemolytic anemia; BOOP = bronchiolitis obliterans–organizing pneumonia; ITP = idiopathic thrombocytopenic purpura; PFTs = pulmonary function tests.

^a–f^See definitions in Table 6.

### Risk Factors for Chronic GVHD

Chronic GVHD occurs in approximately 15% to 30% of children after sibling-donor HSCT [5] and in 20% to 45% of children after unrelated-donor HSCT. There is a higher risk of chronic GVHD with peripheral blood stem cells (PBSCs) and a lower risk with cord blood and selected approaches to haploidentical HSCT.[6-8]

Risk factors for the development of chronic GVHD include the following:[5,9,10]

- Patient’s age (older than 10 years).
- Type of donor (unrelated and mismatched donors).
- Use of PBSCs.
- History of acute GVHD.
- Conditioning regimen (myeloablative and total-body irradiation (TBI)–based regimens).

Several factors have been associated with increased risk of nonrelapse mortality in children who develop significant chronic GVHD. Children who received HLA-mismatched grafts, received PBSCs, were older than 10 years, or had platelet counts lower than 100,000/µL at diagnosis of chronic GVHD have an increased risk of nonrelapse mortality.

The nonrelapse mortality rates were 17% at 1 year, 22% at 3 years, and 24% at 5 years after diagnosis of chronic GVHD. Many of these children required long-term immune suppression. By 3 years after diagnosis of chronic GVHD, about a third of children had died of either relapse or nonrelapse mortality, a third were off immune suppression, and a third still required some form of immune suppressive therapy.[11]

Older literature describes chronic GVHD as either limited or extensive. A National Institutes of Health (NIH) Consensus Workshop in 2006 broadened the description of chronic GVHD to three categories to better predict long-term outcomes.[12] The three NIH grading categories are as follows:[3]

- Mild disease: Involving only one or two sites, with no significant functional impairment (maximum severity score of 1 on a scale of 0 to 3).
- Moderate disease: Either involving more sites (>2) or associated with higher severity score (maximum score of 2 in any site).
- Severe disease: Indicating major disability (a score of 3 in any site or a lung score of 2).

Thus, high-risk patients include those with severe disease of any site or extensive involvement of multiple sites, especially those with the following:

- Symptomatic lung involvement.
- Skin involvement greater than 50%.
- Platelet count lower than 100,000/µL.
- Poor performance score (<60%).
- Weight loss of more than 15%.
- Chronic diarrhea.
- Progressive-onset chronic GVHD.
- History of steroid treatment with more than 0.5 mg/kg of prednisone per day for acute GVHD.

One study demonstrated a much higher chance of long-term GVHD-free survival and lower treatment-related mortality in children with mild and moderate chronic GVHD than in children with severe chronic GVHD. At 8 years, the probability of continued chronic GVHD was 4% for children with mild chronic GVHD, 11% for children with moderate chronic GVHD, and 36% for children with severe chronic GVHD.[13] In another large prospective trial with central review that used the NIH consensus criteria, about 28% of patients were misclassified as having chronic GVHD when they actually had late-acute GVHD. Additionally, there were significant challenges when using the NIH consensus criteria for bronchiolitis obliterans in children.[14]

### Treatment of Chronic GVHD

Steroids remain the cornerstone of chronic GVHD therapy. However, many approaches have been developed to minimize steroid dosing, including the use of calcineurin inhibitors.[15] Topical therapy to affected areas is preferred for patients with limited disease.[16] The following agents have been tested with some success:

- Mycophenolate mofetil.[17]
- Pentostatin.[18]
- Sirolimus.[19]
- Rituximab.[20]
- Ibrutinib.[21]
- Ruxolitinib.[22]
- Belumosudil.[23]

Other approaches, including extracorporeal photopheresis, have been evaluated and show some efficacy in some patients.[24]

A series of drugs have been approved for the treatment of chronic GVHD in children.

Evidence (treatment of chronic GVHD in children):

1. Ibrutinib is indicated for pediatric patients aged 1 year or older with chronic GVHD after failure of one or more lines of systemic therapy. Efficacy of ibrutinib was evaluated in an open-label multicenter trial of pediatric and young adult patients with moderate or severe chronic GVHD. The study included 47 patients who had one or more lines of therapy fail. The median age was 13 years (range, 1–19 years).[25]
  - The overall response rate was 60% (95% confidence interval [CI], 44%–74%) by week 25.
  - The median duration of response was 5.3 months (95% CI, 2.8–8.8).
  - The median time from first response to death or new systemic therapies for chronic GVHD was 14.8 months.
2. The U.S. Food and Drug Administration (FDA) approved ruxolitinib for the treatment of chronic GVHD in adults and children older than 12 years after failure of one or two lines of systemic therapy. The approval was based on one study that randomly assigned 329 patients to receive either ruxolitinib or best available therapy.[22]
  - The overall response rate was 70% (95% CI, 63%–77%) for patients in the ruxolitinib arm and 57% (95% CI, 49%–65%) for patients in the best available therapy arm.
3. Belumosudil, a kinase inhibitor, was approved to treat chronic GVHD in adult and pediatric patients aged 12 years and older after failure of at least two prior lines of systemic therapy. The approval was based on a study of 65 patients with chronic GVHD that was refractory to multiple lines of therapy.[23]
  - The overall response rate was 74% (95% CI, 62%–84%) for patients who received 200 mg of belumosudil once per day and 77% (95% CI, 65%–87%) for patients who received 200 mg of belumosudil twice per day. High response rates were observed in all subgroups of patients.
  - All affected organs demonstrated complete responses.

No comparative studies have been performed with these three agents. Therefore, the best drug for specific types of chronic GVHD in children has yet to be determined.

Besides significantly affecting organ function, quality of life, and functional status, infection is the major cause of chronic GVHD–related death. Therefore, all patients with chronic GVHD receive prophylaxis against Pneumocystis jirovecii pneumonia, common encapsulated organisms, and varicella by using agents such as trimethoprim/sulfamethoxazole, penicillin, and acyclovir.

Transplant-related complications account for 70% of the deaths in patients with chronic GVHD.[5] Guidelines concerning ancillary therapy and supportive care of patients with chronic GVHD have been published.[16,26]

### References

Shlomchik WD, Lee SJ, Couriel D, et al.: Transplantation's greatest challenges: advances in chronic graft-versus-host disease. Biol Blood Marrow Transplant 13 (1 Suppl 1): 2-10, 2007.17222762
Bolaños-Meade J, Vogelsang GB: Chronic graft-versus-host disease. Curr Pharm Des 14 (20): 1974-86, 2008.18691108
Filipovich AH, Weisdorf D, Pavletic S, et al.: National Institutes of Health consensus development project on criteria for clinical trials in chronic graft-versus-host disease: I. Diagnosis and staging working group report. Biol Blood Marrow Transplant 11 (12): 945-56, 2005.16338616
Shulman HM, Kleiner D, Lee SJ, et al.: Histopathologic diagnosis of chronic graft-versus-host disease: National Institutes of Health Consensus Development Project on Criteria for Clinical Trials in Chronic Graft-versus-Host Disease: II. Pathology Working Group Report. Biol Blood Marrow Transplant 12 (1): 31-47, 2006.16399567
Zecca M, Prete A, Rondelli R, et al.: Chronic graft-versus-host disease in children: incidence, risk factors, and impact on outcome. Blood 100 (4): 1192-200, 2002.12149197
Eapen M, Logan BR, Confer DL, et al.: Peripheral blood grafts from unrelated donors are associated with increased acute and chronic graft-versus-host disease without improved survival. Biol Blood Marrow Transplant 13 (12): 1461-8, 2007.18022576
Eapen M, Rubinstein P, Zhang MJ, et al.: Outcomes of transplantation of unrelated donor umbilical cord blood and bone marrow in children with acute leukaemia: a comparison study. Lancet 369 (9577): 1947-54, 2007.17560447
Bertaina A, Zecca M, Buldini B, et al.: Unrelated donor vs HLA-haploidentical α/β T-cell- and B-cell-depleted HSCT in children with acute leukemia. Blood 132 (24): 2594-2607, 2018.30348653
Leung W, Ahn H, Rose SR, et al.: A prospective cohort study of late sequelae of pediatric allogeneic hematopoietic stem cell transplantation. Medicine (Baltimore) 86 (4): 215-24, 2007.17632263
Arora M, Klein JP, Weisdorf DJ, et al.: Chronic GVHD risk score: a Center for International Blood and Marrow Transplant Research analysis. Blood 117 (24): 6714-20, 2011.21493797
Jacobsohn DA, Arora M, Klein JP, et al.: Risk factors associated with increased nonrelapse mortality and with poor overall survival in children with chronic graft-versus-host disease. Blood 118 (16): 4472-9, 2011.21878671
Pavletic SZ, Martin P, Lee SJ, et al.: Measuring therapeutic response in chronic graft-versus-host disease: National Institutes of Health Consensus Development Project on Criteria for Clinical Trials in Chronic Graft-versus-Host Disease: IV. Response Criteria Working Group report. Biol Blood Marrow Transplant 12 (3): 252-66, 2006.16503494
Inagaki J, Moritake H, Nishikawa T, et al.: Long-Term Morbidity and Mortality in Children with Chronic Graft-versus-Host Disease Classified by National Institutes of Health Consensus Criteria after Allogeneic Hematopoietic Stem Cell Transplantation. Biol Blood Marrow Transplant 21 (11): 1973-80, 2015.26234723
Cuvelier GDE, Nemecek ER, Wahlstrom JT, et al.: Benefits and challenges with diagnosing chronic and late acute GVHD in children using the NIH consensus criteria. Blood 134 (3): 304-316, 2019.31043425
Koc S, Leisenring W, Flowers ME, et al.: Therapy for chronic graft-versus-host disease: a randomized trial comparing cyclosporine plus prednisone versus prednisone alone. Blood 100 (1): 48-51, 2002.12070007
Couriel D, Carpenter PA, Cutler C, et al.: Ancillary therapy and supportive care of chronic graft-versus-host disease: national institutes of health consensus development project on criteria for clinical trials in chronic Graft-versus-host disease: V. Ancillary Therapy and Supportive Care Working Group Report. Biol Blood Marrow Transplant 12 (4): 375-96, 2006.16545722
Martin PJ, Storer BE, Rowley SD, et al.: Evaluation of mycophenolate mofetil for initial treatment of chronic graft-versus-host disease. Blood 113 (21): 5074-82, 2009.19270260
Jacobsohn DA, Gilman AL, Rademaker A, et al.: Evaluation of pentostatin in corticosteroid-refractory chronic graft-versus-host disease in children: a Pediatric Blood and Marrow Transplant Consortium study. Blood 114 (20): 4354-60, 2009.19745067
Jurado M, Vallejo C, Pérez-Simón JA, et al.: Sirolimus as part of immunosuppressive therapy for refractory chronic graft-versus-host disease. Biol Blood Marrow Transplant 13 (6): 701-6, 2007.17531780
Cutler C, Miklos D, Kim HT, et al.: Rituximab for steroid-refractory chronic graft-versus-host disease. Blood 108 (2): 756-62, 2006.16551963
Miklos D, Cutler CS, Arora M, et al.: Ibrutinib for chronic graft-versus-host disease after failure of prior therapy. Blood 130 (21): 2243-2250, 2017.28924018
Zeiser R, Polverelli N, Ram R, et al.: Ruxolitinib for Glucocorticoid-Refractory Chronic Graft-versus-Host Disease. N Engl J Med 385 (3): 228-238, 2021.34260836
Cutler C, Lee SJ, Arai S, et al.: Belumosudil for chronic graft-versus-host disease after 2 or more prior lines of therapy: the ROCKstar Study. Blood 138 (22): 2278-2289, 2021.34265047
González Vicent M, Ramirez M, Sevilla J, et al.: Analysis of clinical outcome and survival in pediatric patients undergoing extracorporeal photopheresis for the treatment of steroid-refractory GVHD. J Pediatr Hematol Oncol 32 (8): 589-93, 2010.20962677
Carpenter PA, Kang HJ, Yoo KH, et al.: Ibrutinib Treatment of Pediatric Chronic Graft-versus-Host Disease: Primary Results from the Phase 1/2 iMAGINE Study. Transplant Cell Ther 28 (11): 771.e1-771.e10, 2022.36044977
Carpenter PA, Kitko CL, Elad S, et al.: National Institutes of Health Consensus Development Project on Criteria for Clinical Trials in Chronic Graft-versus-Host Disease: V. The 2014 Ancillary Therapy and Supportive Care Working Group Report. Biol Blood Marrow Transplant 21 (7): 1167-87, 2015.25838185

## Late Mortality After Hematopoietic Stem Cell Transplant (HSCT)

The highest incidence of mortality after HSCT occurs in the first 2 years and is mostly caused by relapse. A study of late mortality (≥2 years posttransplant) in children with malignancies who underwent HSCT showed that approximately 20% of the 479 patients who were alive at 2 years had a late death. The late mortality rate was 15% in the allogeneic HSCT group (median follow-up, 10.0 years [2.0–25.6]), mainly caused by relapse (65%). A total of 26% of patients had a late death after autologous HSCT (median follow-up, 6.7 years [2.0–22.2]),[1] and recurrence of the primary malignancy accounted for 88% of these deaths. Nonrelapse mortality, death caused by chronic graft-versus-host disease (GVHD), and secondary malignancies are less common in children.

Another study reviewed the causes of late mortality after a second allogeneic transplant.[2] Of the children who were alive and relapse free 1 year after a second HSCT, 55% remained alive at 10 years. The most common cause of mortality between 1 and 10 years after HSCT in this group was relapse (77% of deaths), generally occurring in the first 3 years after transplant. The cumulative incidence of nonrelapse mortality at 10 years was 10% for this cohort. Chronic GVHD occurred in 43% of children in this study and was the leading cause of nonrelapse mortality.

One study focused on late mortality in children after autologous HSCT. The study showed that mortality rates of children who underwent transplant remained elevated compared with those of the general population more than 10 years after the procedure. However, their mortality rates approached the rates of the general population at 15 years. The study also showed a decrease in late mortality in the more current treatment eras (before 1990, 35.1%; 1990–1999, 25.6%; 2000–2010, 21.8%; P = .05).[3]

### References

Schechter T, Pole JD, Darmawikarta D, et al.: Late mortality after hematopoietic SCT for a childhood malignancy. Bone Marrow Transplant 48 (10): 1291-5, 2013.23665822
Duncan CN, Majhail NS, Brazauskas R, et al.: Long-term survival and late effects among one-year survivors of second allogeneic hematopoietic cell transplantation for relapsed acute leukemia and myelodysplastic syndromes. Biol Blood Marrow Transplant 21 (1): 151-8, 2015.25316109
Holmqvist AS, Chen Y, Wu J, et al.: Late mortality after autologous blood or marrow transplantation in childhood: a Blood or Marrow Transplant Survivor Study-2 report. Blood 131 (24): 2720-2729, 2018.29661789

## Late Effects After Hematopoietic Stem Cell Transplant (HSCT) in Children

Data from studies of child and adult survivors of HSCT have shown that treatment-related exposures have a significant impact on survival and quality of life.[1] In one study of patients who were alive 2 years after undergoing HSCT, survivors had a 9.9-fold increased risk of premature death compared with age- and sex-matched controls in the U.S. general population.[2] Another multicenter study showed that more than one-half of adult survivors who underwent HSCT during childhood would have a grade 3 or 4 chronic health issue. Survivors had an odds ratio (OR) of 15.1 compared with siblings.[3]

### Methodological Challenges in the Study of Late Effects After HSCT

Although the main cause of death in patients who have undergone HSCT is from relapse of the primary disease, many of these patients die from infections related to graft-versus-host disease (GVHD), second malignancies, or cardiac or pulmonary issues.[2,4-6] In addition, other studies have revealed that up to 40% of HSCT survivors experience severe, disabling, and/or life-threatening events or die because of an adverse event associated with primary or previous cancer treatment.[7,8]

Before studies aimed at decreasing the incidence and severity of these effects are initiated, it is important to understand what leads to the development of these complications:

- Pretransplant therapy: Pretransplant therapy plays an important role, but the details of significant exposures associated with pre-HSCT therapy are not included in many studies.[9]
- Preparative regimen: The transplant preparative regimen itself, including total-body irradiation (TBI) and high-dose chemotherapy, has often been studied, but this intense therapy is only a small part of a long course of therapy filled with potential causes of late effects.
- Allogenicity: The effect of allogenicity—differences in major and minor HLA antigens that lead to GVHD, autoimmunity, chronic inflammation, and, sometimes, undetected organ damage—also contributes to these late effects.
- Extended exposure to nonchemotherapeutic agents: Patients who undergo transplants may receive immunosuppressants that have significant toxicity for an extended period of time (e.g., cyclosporine or tacrolimus, which can cause hypertension and kidney damage). In addition, it is routine for patients to receive extended courses of supportive medications or antimicrobials that can be associated with organ damage (e.g., liposomal amphotericin B). These medications should be considered when assessing the risk of late effects.

Individuals differ in their susceptibility to specific organ damage from chemotherapy or in their risk of GVHD based on genetic differences in both the donor and recipient.[9-11]

### Cardiovascular System Late Effects

Although cardiac dysfunction has been studied extensively in non-HSCT settings, less is known about the incidence and predictors of congestive heart failure following HSCT in childhood. Potentially cardiotoxic exposures unique to HSCT include the following:[12]

- Conditioning with high-dose chemotherapy, especially cyclophosphamide.
- TBI.

HSCT survivors are at increased risk of developing cardiovascular risk factors such as hypertension and diabetes, partly as a result of exposure to TBI and prolonged immunosuppressive therapy after allogeneic HSCT or related to other health conditions (e.g., hypothyroidism or growth hormone deficiency).[8,12] In a study of 661 pediatric patients who survived at least 2 years after allogeneic HSCT, 52% of patients had obesity or were overweight at their most recent examination, 18% of patients had dyslipidemia (associated with pre-HSCT anthracycline or cranial or chest irradiation), and 7% of patients were diagnosed with diabetes.[13]

Rates of cardiovascular outcomes were examined among nearly 1,500 transplant survivors (surviving ≥2 years) who were treated in Seattle from 1985 to 2006. The survivors and a population-based comparison group were matched by age, year, and sex.[14] Survivors experienced increased rates of cardiovascular death (adjusted incidence rate difference, 3.6 per 1,000 person-years [95% confidence interval, 1.7–5.5]). Survivors also had an increased cumulative incidence of the following:

- Ischemic heart disease.
- Cardiomyopathy/heart failure.
- Stroke.
- Vascular diseases.
- Rhythm disorders.

Survivors also had an increased cumulative incidence of related conditions that increased their risk of developing more serious cardiovascular disease (i.e., hypertension, renal disease, dyslipidemia, and diabetes).[14]

In addition, cardiac function and pre-HSCT exposures to chemotherapy and radiation therapy have been shown to significantly impact post-HSCT cardiac function. In evaluating post-HSCT patients for long-term issues, it is important to consider levels of pre-HSCT anthracycline and chest irradiation.[15] Although more specific studies are needed to verify this approach, current evidence suggests that the risk of late-occurring cardiovascular complications after HSCT may largely result from pre-HSCT therapeutic exposures, with little additional risk from conditioning-related exposures or GVHD.[16,17]

For more information, see the Late Effects of the Cardiovascular System section in Late Effects of Treatment for Childhood Cancer.

### Neurocognitive Late Effects

Many studies report normal neurodevelopment after HSCT, with no evidence of decline.[18-25]

Researchers from St. Jude Children’s Research Hospital have reported on the largest longitudinal cohort to date, describing remarkable stability in global cognitive function and academic achievement during 5 years of posttransplant follow-up.[21-23] This research group reported poorer outcomes in patients who underwent unrelated-donor transplant when the patients received TBI and when they experienced GVHD. But these effects on outcomes were small compared with the much larger effects of socioeconomic status on cognitive function.[22] Most published studies report similar outcomes. Normal cognitive function and academic achievement were reported in a cohort of 47 patients monitored prospectively through 2 years post-HSCT.[25] Stable cognitive function was also noted in a large cohort monitored from pretransplant to 2 years post-HSCT.[20] A smaller study reported similar normal functioning and the absence of declines over time in HSCT survivors.[18] HSCT survivors did not differ from their siblings in cognitive and academic function, with the exception that survivors performed better than siblings on measures of perceptual organization.[19] Based on findings to date, it appears that HSCT poses low-to-minimal risk of late cognitive and academic deficits in survivors.

Several studies, however, have reported some decline in cognitive function after HSCT.[26-32] These studies tended to include samples with a high percentage of very young children. One study reported a significant decline in IQ in their cohort at 1 year post-HSCT, deficits that were maintained at 3 years post-HSCT.[27,28] Similarly, studies from Sweden have reported deficits in visual-spatial domains and executive functioning in very young children who underwent transplant with TBI.[30,31] Another study from St. Jude Children's Research Hospital reported that while all children younger than 3 years had a decline in IQ at 1 year after transplant, patients who did not receive TBI during conditioning recovered later. Patients who received TBI had a significantly lower IQ at 5 years (P = .05) than did those who did not receive TBI.[32]

For more information, see the Hematopoietic stem cell transplant (HSCT) section in Late Effects of Treatment for Childhood Cancer.

### Digestive System Late Effects

#### Gastrointestinal, biliary, and pancreatic dysfunction

Most gastrointestinal late effects are related to protracted acute GVHD and chronic GVHD (see Table 11). For more information, see the Hepatobiliary section in Late Effects of Treatment for Childhood Cancer.

As GVHD is controlled and tolerance is developed, most symptoms resolve. Major hepatobiliary concerns include the consequences of viral hepatitis acquired before or during the transplant, biliary stone disease, and focal liver lesions.[33] Viral serology and polymerase chain reaction should be performed to differentiate these from GVHD presenting with hepatocellular injury.[34]

Table 11. Causes of Gastrointestinal (GI), Hepatobiliary, and Pancreatic Problems in Long-Term Transplant Survivors^a^

Problem Areas | Common Causes | Less Common Causes
Esophageal symptoms: heartburn, dysphagia, painful swallowing [35-40] | Oral chronic GVHD (mucosal changes, poor dentition, xerostomia) | Chronic GVHD of the esophagus (webs, rings, submucosal fibrosis and strictures, aperistalsis)
Esophageal symptoms: heartburn, dysphagia, painful swallowing [35-40] | Reflux of gastric fluid | Hypopharyngeal dysmotility (myasthenia gravis, cricopharyngeal incoordination)
Esophageal symptoms: heartburn, dysphagia, painful swallowing [35-40] | Reflux of gastric fluid | Squamous > adenocarcinoma
Esophageal symptoms: heartburn, dysphagia, painful swallowing [35-40] | Reflux of gastric fluid | Pill esophagitis
Esophageal symptoms: heartburn, dysphagia, painful swallowing [35-40] | Reflux of gastric fluid | Infection (fungal, viral)
Upper gut symptoms: anorexia, nausea, vomiting [41-45] | Protracted acute GI GVHD | Secondary adrenal insufficiency
Upper gut symptoms: anorexia, nausea, vomiting [41-45] | Activation of latent infection (CMV, HSV, VZV) | Acquisition of infection (enteric viruses, Giardia, cryptosporidia, Haemophilus pylori)
Upper gut symptoms: anorexia, nausea, vomiting [41-45] | Medication adverse effects | Gut dysmotility
Mid gut and colonic symptoms: diarrhea and abdominal pain [46,47] | Protracted acute GI GVHD | Acquisition of infection (enteric viruses, bacteria, parasites)
Mid gut and colonic symptoms: diarrhea and abdominal pain [46,47] | Activation of latent CMV, VZV | Pancreatic insufficiency
Mid gut and colonic symptoms: diarrhea and abdominal pain [46,47] | Drugs (mycophenolate mofetil, Mg^++^, antibiotics) | Clostridium difficile colitis
Mid gut and colonic symptoms: diarrhea and abdominal pain [46,47] | Drugs (mycophenolate mofetil, Mg^++^, antibiotics) | Collagen-encased bowel (GVHD)
Mid gut and colonic symptoms: diarrhea and abdominal pain [46,47] | Drugs (mycophenolate mofetil, Mg^++^, antibiotics) | Rare: inflammatory bowel disease, sprue;[47] bile salt malabsorption; disaccharide malabsorption
Liver problems [33,48-57] | Cholestatic GVHD | Hepatitic GVHD
Liver problems [33,48-57] | Chronic viral hepatitis (B and C) | VZV or HSV hepatitis
Liver problems [33,48-57] | Cirrhosis | Fungal abscess
Liver problems [33,48-57] | Focal nodular hyperplasia | Nodular regenerative hyperplasia
Liver problems [33,48-57] | Nonspecific elevation of liver enzymes in serum (AP, ALT, GGT) | Biliary obstruction
Liver problems [33,48-57] | Nonspecific elevation of liver enzymes in serum (AP, ALT, GGT) | Drug-induced liver injury
Biliary and pancreatic problems [58 - 61] | Cholecystitis | Pancreatic atrophy/insufficiency
Biliary and pancreatic problems [58 - 61] | Common duct stones/sludge | Pancreatitis/edema, stone or sludge related
Biliary and pancreatic problems [58 - 61] | Gall bladder sludge (calcium bilirubinate) | Pancreatitis, tacrolimus related
Biliary and pancreatic problems [58 - 61] | Gallstones | Pancreatitis, tacrolimus related

ALT = alanine transaminase; AP = alkaline phosphatase; CMV = cytomegalovirus; GGT = gamma glutamyl transpeptidase; GVHD = graft-versus-host disease; HSV = herpes simplex virus; Mg^++^ = magnesium; VZV = varicella zoster virus.

^a^Reprinted from Biology of Blood and Marrow Transplantation (https://www.sciencedirect.com/journal/biology-of-blood-and-marrow-transplantation), Volume 17 (Issue 11), Michael L. Nieder, George B. McDonald, Aiko Kida, Sangeeta Hingorani, Saro H. Armenian, Kenneth R. Cooke, Michael A. Pulsipher, K. Scott Baker, National Cancer Institute–National Heart, Lung and Blood Institute/Pediatric Blood and Marrow Transplant Consortium First International Consensus Conference on Late Effects After Pediatric Hematopoietic Cell Transplantation: Long-Term Organ Damage and Dysfunction, Pages 1573–1584, Copyright 2011, with permission from American Society for Blood and Marrow Transplantation and Elsevier.[34]

#### Iron overload

Iron overload occurs in almost all patients who undergo HSCT, especially if the procedure is for a condition associated with transfusion dependence before HSCT (e.g., thalassemia, bone marrow failure syndromes) or pre-HSCT treatments requiring transfusions after myelotoxic chemotherapy (e.g., acute leukemias). Inflammatory conditions such as GVHD also increase gastrointestinal iron absorption. Non-HSCT conditions leading to iron overload can lead to cardiac dysfunction, endocrine disorders (e.g., pituitary insufficiency, hypothyroidism), diabetes, neurocognitive effects, and second malignancies.[34]

The effects of iron overload on morbidity post-HSCT have not been well studied. However, reducing iron levels after HSCT for thalassemia has been shown to improve cardiac function.[62]

Data supporting iron reduction therapies (such as phlebotomy or chelation after HSCT) have not identified specific levels at which iron reduction should be performed. However, higher levels of ferritin and/or evidence of significant iron overload by liver biopsy or T2-weighted magnetic resonance imaging (MRI) [63] should be addressed by iron reduction therapy.[64]

### Endocrine System Late Effects

#### Thyroid dysfunction

Studies show that rates of thyroid dysfunction in children after myeloablative HSCT vary, with larger series reporting an average incidence of about 30%.[65-75] A lower incidence in adults (on average, 15%) and a notable increase in incidence in children younger than 10 years who underwent HSCT suggest that a developing thyroid gland may be more susceptible to damage.[65,67,71,75]

Pretransplant local thyroid radiation contributes to high rates of thyroid dysfunction in patients with Hodgkin lymphoma.[65] Early studies showed very high rates of thyroid dysfunction after high single-dose fractions of TBI,[76] but traditional fractionated TBI/cyclophosphamide compared with busulfan/cyclophosphamide showed similar rates of thyroid dysfunction, suggesting a role for high-dose chemotherapy in thyroid damage.[68-70] Notably, one large study showed that patients treated with either TBI or busulfan had similar high rates of thyroid dysfunction, while patients treated with treosulfan or reduced-intensity, chemotherapy-based regimens had low rates of thyroid disease.[75] For more information, see the Posttransplant thyroid dysfunction section in Late Effects of Treatment for Childhood Cancer.

Higher rates of thyroid dysfunction occur with single-drug prophylaxis than with three-drug GVHD prophylaxis.[77] Increased rates of thyroid dysfunction occur after unrelated-donor HSCT than after related-donor HSCT (36% vs. 9%),[66] suggesting a role for alloimmune damage in causing thyroid dysfunction.[70,78]

#### Growth impairment

Growth impairment is generally multifactorial. Factors that play a role in failure to achieve expected adult height in young children who have undergone HSCT include the following:

- Diminished growth hormone level.
- Thyroid dysfunction.
- Disruption of pubertal sex hormone production.
- Steroid therapy.
- Poor nutritional status.

The incidence of growth impairment varies from 20% to 80%, depending on age, risk factors, and the definition of growth impairment used by reporting groups.[72,73,79-82] Risk factors include the following:[68,69,80,83]

- TBI.
- Cranial irradiation.
- Younger age.
- HSCT for acute lymphoblastic leukemia.
- HSCT occurring during a pubertal growth spurt.[84]

Patients younger than 10 years at the time of HSCT are at the highest risk of growth impairment, but they also respond best to growth hormone replacement therapy. Early screening and referral of patients with signs of growth impairment to endocrinology specialists can result in significant restoration of height in younger children.[82]

For more information, see the Growth hormone deficiency section in Late Effects of Treatment for Childhood Cancer.

#### Abnormal body composition and metabolic syndrome

After HSCT, adult survivors have a 2.3-fold higher risk of premature cardiovascular-related death compared with the general population.[85,86] The exact etiology of cardiovascular risk and subsequent death is largely unknown. However, the development of metabolic syndrome (a constellation of central obesity, insulin resistance, glucose intolerance, dyslipidemia, and hypertension), especially insulin resistance, as a consequence of HSCT has been suggested.[87-89]

In studies of conventionally treated leukemia survivors compared with those who underwent HSCT, transplant survivors are significantly more likely to manifest metabolic syndrome or multiple adverse cardiac risk factors, including central adiposity, hypertension, insulin resistance, and dyslipidemia.[34,90,91] The concern over time is that survivors who develop metabolic syndrome after HSCT will be at higher risk of significant cardiovascular-related events and/or premature death from cardiovascular-related causes.

For more information, see the Metabolic Syndrome section in Late Effects of Treatment for Childhood Cancer.

#### Sarcopenic obesity

The association of obesity with diabetes and cardiovascular disease risk in the general population is well established, but obesity as determined by body mass index (BMI) is uncommon in long-term survivors after HSCT.[91] However, despite having a normal BMI, HSCT survivors develop significantly altered body composition that results in both an increase in total percent fat mass and a reduction in lean body mass. This finding, called sarcopenic obesity, results in a loss of myocyte insulin receptors and an increase in adipocyte insulin receptors; the latter are less efficient in binding insulin and clearing glucose, ultimately contributing to insulin resistance.[92-94]

Preliminary data from 119 children and young adult survivors and 81 healthy sibling controls found that HSCT survivors had significantly lower weight but no differences in BMI or waist circumference when compared with siblings.[95] HSCT survivors had a significantly higher percent fat mass and lower lean body mass than did controls. HSCT survivors were significantly more insulin resistant than were controls, and they also had a higher incidence of other cardiovascular risk factors, such as elevated total cholesterol, low-density lipoprotein cholesterol, and triglycerides. These differences were found only in patients who had received TBI as part of their transplant conditioning regimen.

### Musculoskeletal System Late Effects

#### Low bone mineral density

Few studies have addressed low bone mineral density after HSCT in children.[96-102] A significant portion of children experienced reduction in total-body bone mineral density or lumbar Z-scores showing osteopenia (18%–33%) or osteoporosis (6%–21%). Although general risk factors have been described (female sex, inactivity, poor nutritional status, White or Asian ethnicity, family history, TBI, craniospinal irradiation, corticosteroid therapy, GVHD, cyclosporine, and endocrine deficiencies [e.g., growth hormone deficiency, hypogonadism]), most reported populations have been too small for multivariate analysis to test the relative importance of each factor.[103-113]

Some studies in adults have shown improvement over time in low bone mineral density after HSCT.[101,114,115] However, this finding has yet to be shown in children.

Treatment for children has generally included a multifactorial approach, with vitamin D and calcium supplementation, minimization of corticosteroid therapy, participation in weight-bearing exercise, and resolution of other endocrine problems. The role of bisphosphonate therapy in children with this condition is unclear.

For more information, see the Osteoporosis and Fractures section in Late Effects of Treatment for Childhood Cancer.

#### Osteonecrosis

Reported incidence of osteonecrosis in children after HSCT has been 1% to 14%. However, these studies were retrospective and underestimated actual incidence because patients may have been asymptomatic early in the course of the disease.[116-118] Two prospective studies showed an incidence of 30% and 44% with routine MRI screening of possible target joints.[100,119] Osteonecrosis generally occurs within 3 years after HSCT, with a median onset of about 1 year. The most common locations include knees (30%–40%), hips (19%–24%), and shoulders (9%). Most patients experience osteonecrosis in two or more joints.[76,116,120,121]

In one prospective report, risk factors by multivariate analysis included age (markedly increased in children older than 10 years; OR, 7.4) and presence of osteonecrosis at the time of transplant. It is important to note that pre-HSCT factors such as corticosteroid exposure are very important in determining patient risk. In this study, 14 of 44 children who developed osteonecrosis had the disease before HSCT.[119] A Center for International Blood and Marrow Transplant Research (CIBMTR) retrospective nested control study of 160 cases and 478 control children suggested older age (>5 years), female sex, and the presence of chronic GVHD as risk factors for developing osteonecrosis.[122]

Treatment has generally consisted of minimization of corticosteroid therapy and surgical joint replacement. Most patients are not diagnosed until they present with symptoms. In one study of 44 patients with osteonecrosis lesions in whom routine yearly MRI was performed, 4 resolved completely and 2 had resolution in one of multiply involved joints.[119] The observation that some lesions can heal over time suggests caution in the surgical management of asymptomatic lesions.

For more information, see the Osteonecrosis section in Late Effects of Treatment for Childhood Cancer.

### Reproductive System Late Effects

#### Pubertal development

Delayed, absent, or incomplete pubertal development commonly occurs after HSCT. Two studies showed pubertal delay or failure in 16% of female children who received cyclophosphamide alone, 72% of those who received busulfan/cyclophosphamide, and 57% of those who underwent fractionated TBI. In males, incomplete pubertal development or failure was noted in 14% of those who received cyclophosphamide alone, 48% of those who received busulfan/cyclophosphamide, and 58% of those who underwent TBI.[74,123] Boys who received more than 24 Gy of radiation to the testicles developed azoospermia and also experienced failure of testosterone production, requiring supplementation to develop secondary sexual characteristics.[124]

#### Fertility

##### Women

Pretransplant and transplant cyclophosphamide exposure is the best-studied agent affecting fertility. Postpubertal women younger than 30 years can tolerate up to 20 g/m^2^ of cyclophosphamide and have preserved ovarian function. Prepubertal females can tolerate as much as 25 g/m^2^ to 30 g/m^2^. Although the additional effect added by pretransplant exposures to cyclophosphamide and other agents has not been specifically calculated in studies, these exposures plus transplant-related chemotherapy and radiation therapy lead to ovarian failure in 65% to 84% of females undergoing myeloablative HSCT.[125-128] The use of cyclophosphamide, busulfan, and TBI as part of the preparative regimen are associated with worse ovarian function. Younger age at the time of HSCT is associated with a higher chance of menarche and ovulation.[129,130] For more information, see the Ovarian function after HSCT section in Late Effects of Treatment for Childhood Cancer.

Studies of pregnancy are challenging because data seldom indicate whether individuals are trying to conceive. Nonetheless, a large study of pregnancy in pediatric and adult survivors of myeloablative transplant demonstrated conception in 32 of 708 patients (4.5%).[125] Of those trying to conceive, patients exposed to cyclophosphamide alone (total dose 6.7 g/m^2^ with no pretransplant exposure) had the best chance of conception (56 of 103, 54%), while those receiving myeloablative busulfan/cyclophosphamide (0 of 73, 0%) or TBI (7 of 532, 1.3%) had much lower rates of conception.

##### Men

The ability of men to produce functional sperm decreases with exposure to higher doses and specific types of chemotherapy. Most men will become azoospermic at a cyclophosphamide dose of 300 mg/kg.[131] After HSCT, 48% to 85% of men will experience gonadal failure.[125,131,132] One study showed that men who received cyclophosphamide conceived only 24% of the time, compared with 6.5% of men who received busulfan/cyclophosphamide and 1.3% of those who underwent TBI.[125] For more information, see the Testicular function after HSCT section in Late Effects of Treatment for Childhood Cancer.

##### Effect of reduced-toxicity, reduced-intensity, or nonmyeloablative regimens

Based on clear evidence of dose effect and the lowered gonadotoxicity of some reduced-toxicity chemotherapy regimens, the use of reduced-intensity, reduced-toxicity, or nonmyeloablative regimens will likely lead to a higher chance of preserved fertility after HSCT. Registry reports are beginning to describe pregnancies after these procedures.[128] In addition, a single-center study compared myeloablative busulfan/cyclophosphamide with reduced-intensity fludarabine/melphalan.[133][Level of evidence C1] Spontaneous puberty occurred in 56% of girls and 89% of boys after busulfan/cyclophosphamide, whereas 90% of girls and all of the boys in the fludarabine/melphalan group entered puberty spontaneously (P = .012). Significantly more girls (61%) who received busulfan/cyclophosphamide required hormone replacement than did girls in the fludarabine/melphalan group (10.5%; P = .012). In boys, no difference was noted between the two conditioning groups in time to follicle-stimulating hormone (FSH) elevation (median, 4 years in the fludarabine/melphalan group vs. 6 years in the busulfan/cyclophosphamide group). While the two regimens had similar effects on testicular function, ovarian function seemed to be better preserved in girls undergoing HSCT with reduced-intensity conditioning approaches.

Another study compared serum concentrations of antimüllerian hormone (AMH) and inhibin B in 121 children who survived more than 1 year following a single HSCT and received a treosulfan-based regimen (treosulfan; low-toxicity), a fludarabine/melphalan regimen (Flu/Mel; reduced-intensity), or a busulphan/cyclophosphamide regimen (Bu/Cy; myeloablative). Mean age at HSCT was 3.6 years; mean age at follow-up was 11.8 years. Mean length of follow-up was 9.9 years. Mean AMH standard deviation scores (SDS) were significantly higher after treosulfan (-1.047) and Flu/Mel (-1.255) than after Bu/Cy (-1.543), suggesting less ovarian reserve impairment after treosulfan and Flu/Mel than after Bu/Cy. Mean serum AMH concentration was significantly better with treosulfan (>1.0 μg/l) than with Flu/Mel or Bu/Cy. In males, mean inhibin B SDS was significantly higher after treosulfan (-0.506) than after Flu/Mel (-2.53) or some Bu/Cy (-1.23). The authors concluded that treosulfan-based regimens may confer a more favorable outlook for gonadal reserve in both sexes than Flu/Mel or Bu/Cy regimens.[134] A similar report showed better pubertal attainment and Leydig cell function in children receiving treosulfan regimens compared with busulfan and TBI-based approaches.[135]

An additional study compared gonadal function markers after myeloablative conditioning with Bu/Cy and cyclophosphamide/TBI regimens with a reduced-intensity conditioning regimen using fludarabine/melphalan/alemtuzumab.[136]

- Female patients who received reduced-intensity conditioning were less likely to develop primary ovarian insufficiency, as demonstrated by elevated FSH (P = .02) and low estradiol (P = .01) or elevated luteinizing hormone (P = .09).
- Most females in the reduced-intensity conditioning (75%) and myeloablative conditioning (93%) groups had low AMH levels, indicating low or absent ovarian reserve.
- In males, although median levels of inhibin B were higher after reduced-intensity conditioning, they were not significantly different between the two groups. Ten of 11 males who received reduced-intensity conditioning (91%) and all ten males who received myeloablative conditioning (100%) had azoospermia or oligospermia. The median time from HSCT to semen analysis was 3.7 years (range, 1.3–12.2 years).
- Many of these patients had pre-HSCT exposures to gonadotoxic drugs that were not taken into consideration in the analysis.
- Although this study was small, it provided evidence that risk of infertility after reduced-intensity conditioning regimens such as fludarabine/melphalan/alemtuzumab may be substantial.

A multi-institutional, international, retrospective cohort study included 326 adolescent and young adult patients aged 10 to 40 years. The study assessed AMH, FSH, and estradiol levels to compare fertility potential and gonadal failure 1 to 2 years after HSCT in patients who received myeloablative conditioning versus reduced-intensity conditioning (regimens were not defined further).[137]

- Only 1 of 45 female patients (2.2%) who received myeloablative conditioning had an AMH level of ≥0.5 ng/mL, compared with 4 of 26 (15.4%) who received reduced-intensity conditioning (P = .06).
- Of female patients who received myeloablative conditioning, 8 of 45 (17.8%) had detectable AMH levels of ≥0.03 ng/mL, compared with 12 of 26 who received reduced-intensity conditioning (P = .015).
- The gonadal failure rate was 55.3% in female patients. The only significant risk factor was increased age at time of HSCT in both univariate (median age, 17.6 years vs. 13.9 years; P < .0001) and multivariate analyses (OR, 1.11; 95% CI, 1.03–1.22 for each year increase; P = .012).
- Diagnosis group, conditioning intensity, TBI, chronic GVHD, and cyclophosphamide dose were not significantly associated with risk of gonadal failure in female patients.
- In male patients, 55 of 125 (44.0%) had FSH levels of ≥10.4 mIU/mL, representing likely azoospermia. Univariate analysis showed significant risk factors of older age at time of HSCT (median age, 16.2 years vs. 14.4 years; P = .0005) and TBI dose (P = .002). Multivariate analysis showed significant risk factors of increased age (OR, 1.16; 95% CI, 1.06–1.27 for each year increase; P = .0016) and standard doses of TBI (≥600 cGy) compared with no TBI (OR, 6.23; 95% CI, 2.21–19.15; P = .0008).
- Similar to female patients, diagnosis group, conditioning intensity, chronic GVHD, and cyclophosphamide dose were not significantly associated with the risk of gonadal failure in male patients.
- Patients with Fanconi anemia were excluded from the study based on high rates of baseline infertility. However, other nonmalignant indications for transplant that similarly predispose patients to infertility were not necessarily excluded, which may confound findings in the reduced-intensity conditioning cohort.

### Respiratory System Late Effects

#### Chronic pulmonary dysfunction

The following two forms of chronic pulmonary dysfunction are observed after HSCT:[138-143]

- Obstructive lung disease.
- Restrictive lung disease.

The incidence of both forms of lung toxicity can range from 10% to 40%, depending on donor source, the time interval after HSCT, definition applied, and presence of chronic GVHD. In both conditions, collagen deposition and the development of fibrosis in either the interstitial space (restrictive lung disease) or the peribronchiolar space (obstructive lung disease) are believed to underlie the pathology.[144,145]

##### Obstructive lung disease

The most common form of obstructive lung disease after allogeneic HSCT is bronchiolitis obliterans.[140,143,146,147] This condition is an inflammatory process resulting in bronchiolar obliteration, fibrosis, and progressive obstructive lung disease.[138]

Historically, the term bronchiolitis obliterans was used to describe chronic GVHD of the lung, and it begins 6 to 20 months after HSCT. Pulmonary function tests show obstructive lung disease with general preservation of forced vital capacity (FVC), reductions in forced expiratory volume in 1 second (FEV1), and associated decreases in the FEV1/FVC ratio with or without significant declines in the diffusion capacity of the lung for carbon monoxide (DLCO).

Risk factors for bronchiolitis obliterans include the following:[138,146,148]

- Lower pretransplant FEV1/FVC values.
- Concomitant pulmonary infections.
- Chronic aspiration.
- Acute and chronic GVHD.
- Older recipient age.
- Use of mismatched donors.
- High-dose (vs. reduced-intensity) conditioning.

The clinical course of bronchiolitis obliterans is variable, but patients frequently develop progressive and debilitating respiratory failure despite the initiation of enhanced immunosuppression.

Standard treatment for obstructive lung disease combines enhanced immunosuppression with supportive care, including antimicrobial prophylaxis, bronchodilator therapy, and supplemental oxygen, when indicated.[148,149] The potential role for tumor necrosis factor-alpha in the pathogenesis of obstructive lung disease suggests that neutralizing agents such as etanercept may have promise.[150]

##### Restrictive lung disease

Restrictive lung disease is defined by reductions in FVC, total lung capacity (TLC), and DLCO. In contrast to obstructive lung disease, the FEV1/FVC ratio is maintained near 100%. Restrictive lung disease is common after HSCT and has been reported in 25% to 45% of patients by day 100.[138] Importantly, declines in TLC or FVC occurring at 100 days and 1 year after HSCT are associated with an increase in nonrelapse mortality. Early reports suggested that the incidence of restrictive lung disease increases with advancing recipient age, but subsequent studies have revealed significant restrictive lung disease in children receiving HSCT.[151]

The most recognizable form of restrictive lung disease is bronchiolitis obliterans organizing pneumonia (BOOP), more recently called cryptogenic organizing pneumonia (COP). Clinical features include dry cough, shortness of breath, and fever. Radiographic findings show diffuse, peripheral, fluffy infiltrates consistent with airspace consolidation. Although reported in fewer than 10% of HSCT recipients, the development of BOOP/COP is strongly associated with previous acute and chronic GVHD.[144]

Patients with restrictive lung disease have limited responses to multiple agents such as corticosteroids, cyclosporine, tacrolimus, and azathioprine.[149] The potential role for tumor necrosis factor-alpha in the pathogenesis of restrictive lung disease suggests that neutralizing agents such as etanercept may have promise.[150]

For more information, see the Respiratory Complications Associated With HSCT section in Late Effects of Treatment for Childhood Cancer.

### Urinary System Late Effects

#### Renal disease

Chronic kidney disease is frequently diagnosed after transplant. There are many clinical forms of chronic kidney disease, but the most commonly described ones include thrombotic microangiopathy, nephrotic syndrome, calcineurin inhibitor toxicity, acute kidney injury, and GVHD-related chronic kidney disease. Various risk factors associated with the development of chronic kidney disease have been described. However, recent studies suggest that acute and chronic GVHD may be a proximal cause of renal injury.[34]

In a systematic review of 9,317 adults and children from 28 cohorts who underwent HSCT, approximately 16.6% of patients (range, 3.6% to 89%) developed chronic kidney disease, defined as a decrease in estimated glomerular filtration rate of at least 24.5 mL/min/1.73 m^2^ within the first year after transplant.[152] The cumulative incidence of chronic kidney disease developing approximately 5 years after transplant ranged from 4.4% to 44.3%, depending on the type of transplant and stage of chronic kidney disease.[153-155] Mortality rates among patients with chronic kidney disease in this setting were higher than those in transplant recipients who retained normal renal function, even when studies controlled for comorbidities.[156]

It is important to aggressively treat hypertension in patients post-HSCT, especially in those treated with prolonged courses of calcineurin inhibitors. Whether patients with post-HSCT albuminuria and hypertension benefit from treatment with angiotensin-converting enzyme (ACE) inhibitors or angiotensin receptor blockers requires further study, but careful control of hypertension with captopril, an ACE inhibitor, did show a benefit in a small study.[157]

### Quality of Life

#### Health-related quality of life (HRQL)

HRQL is a multidimensional construct, incorporating a subjective appraisal of one’s functioning and well-being, with reference to the impact of health issues on overall quality of life.[158,159] Many studies have shown that HRQL varies according to the following:[160]

- Time after HSCT: HRQL is worse with more recent HSCT.
- Transplant type: Unrelated-donor HSCT recipients have worse HRQL than do autologous or allogeneic related-donor HSCT recipients.
- Presence or absence of HSCT-related sequelae: HRQL is worse with chronic GVHD.

Pre-HSCT factors, such as family cohesion and a child’s adaptive functioning, have been shown to affect HRQL.[161] Several groups have also identified the importance of pre-HSCT parenting stress on parental ratings of children’s HRQL post-HSCT.[161-165] A report of the trajectories of HRQL over the 12 months after HSCT noted that the poorest HRQL was seen at 3 months post-HSCT, with steady improvement thereafter. Recipients of unrelated-donor transplants had the steepest declines in HRQL from baseline to 3 months. Another study reported that compromised emotional functioning, high levels of worry, and reduced communication during the acute recovery period had a negative impact on HRQL at 1-year post-HSCT.[166] Longitudinal studies identified an association of the following additional baseline risk factors with the trajectory of HRQL after HSCT:

- Child's age: Older children had worse HRQL.[161,167,168]
- Child's sex: Females had worse HRQL.[168]
- Rater: Mothers reported lower HRQL than did fathers; parents reported lower HRQL than did children.[169,170]
- Concordance by primary language or by sex of the raters: Concordant pairs reported higher HRQL.[171]
- Parental emotional distress: Greater parental distress led to worse HRQL.[167]
- Child's race: African American children had better HRQL.[168]

A report that investigated the impact of specific HSCT complications indicated that HRQL was worse among children with severe end-organ toxicity, systemic infection, or GVHD.[162] Cross-sectional studies reported that the HRQL among pediatric HSCT survivors of 5 years or longer was reasonably good, although psychological, cognitive, or physical problems appeared to negatively influence HRQL. Female sex, causal diagnosis for HSCT (e.g., acute myelogenous leukemia patients had worse HRQL), and intensity of pre-HSCT therapy were all identified as affecting HRQL post-HSCT.[172,173] Finally, another cross-sectional study of children 5 to 10 years post-HSCT cautioned that parental concerns about the child’s vulnerability may induce overprotective parenting.[165]

#### Functional outcomes

##### Physician-reported physical performance

Clinician reports of long-term disability among childhood HSCT survivors suggest that the prevalence and severity of functional loss is low, as described in the following studies:

- A study from the European Society for Blood and Marrow Transplantation used the Karnofsky performance scale to report outcomes among 647 HSCT survivors (surviving ≥5 years).[174] In this cohort, 40% of survivors were younger than 18 years when they underwent transplant; only 19% had Karnofsky scores lower than 100. Seven percent had scores lower than 80, defined as the inability to work. Similar low rates of clinician-graded poor functional outcomes were reported by two other groups.[172,175]
- Among 50 survivors of childhood allogeneic HSCT treated at the City of Hope National Medical Center and Stanford University Hospital, all had Karnofsky scores of 90 or 100.[175]
- Among 73 young adults (mean age, 26 years) treated at the Karolinska University Hospital, the median Karnofsky score at 10 years post-HSCT was 90.[172]

##### Self-reported physical performance

Self-reported and proxy data among survivors of childhood HSCT indicated similar low rates of functional loss in the following studies:

- One study evaluated 22 survivors of childhood allogeneic HSCT (mean age at HSCT, 11 years; mean age at questionnaire, 25 years) and reported no differences between survivors’ scores and population-expected values on standardized physical performance scales.[176]
- Another study compared a group of survivors who underwent transplant for childhood leukemia (n = 142) with a group of childhood leukemia survivors treated with chemotherapy alone (n = 288).[177] There were no differences between the groups on the physical function and leisure scales using multiple standardized measures.

Other studies that have reported functional limitations include the following:

- In the Bone Marrow Transplant Survivors Study (BMTSS) that included 235 survivors of childhood HSCT, 17% reported long-term physical performance limitations, compared with 8.7% of a sibling comparison group.[178]
- A Seattle study evaluated physical function in 214 young adults (median age at questionnaire, 28.7 years; 118 males) who underwent transplant at a median age of 11.9 years. When compared with age- and sex-matched controls, the HSCT survivors in this cohort scored one-half standard deviation lower on the physical component score of the SF-36 and the physical function and role physical subscales, quality-of-life measures.[173]
- A Swedish study also identified lower self-reported physical health among 73 young adult (median age, 26 years) HSCT survivors who were a median of 10 years after transplant. HSCT survivors scored significantly below population normative values on physical functioning (90.2 for HSCT survivors vs. 95.3 for population), satisfaction with physical health (66.0 for HSCT survivors vs. 78.7 for population), and role limitation because of physical health (72.7 for HSCT survivors vs. 84.9 for population).[172]

##### Measured physical performance

Objective measurements of function in the pediatric HSCT patient and survivor population hint that loss of physical capacity may be a bigger problem than revealed in studies that rely on clinician or self-report data. Studies measuring cardiopulmonary fitness have observed the following:

- One study used exercise capacity with cycle ergometry in a group of 20 children and young adults before HSCT, 31 patients at 1 year post-HSCT, and 70 healthy controls.[179] The average peak oxygen consumption was 21 mL/kg/min in the pre-HSCT group, 24 mL/kg/min in the post-HSCT group, and 34 mL/kg/min in the healthy controls. Among the HSCT survivors, 62% of those with cancer diagnoses scored in the lowest fifth percentile for peak oxygen consumption, compared with healthy controls.
- Another study examined exercise capacity with a Bruce treadmill protocol in 31 survivors of pediatric HSCT. In this cohort, 25.8% of HSCT survivors had exercise capacities in the 70% to 79% of predicted category, and 41.9% had exercise capacities in the lower than 70% of predicted category.[180]
- A third study investigated exercise capacity among 33 HSCT survivors who underwent transplant at a mean age of 11.3 years. At 5 years post-HSCT, only 4 of 33 survivors scored above the 75th percentile on a serial cycle ergometry test.[181]

##### Predictors of poor physical performance

The BMTSS found associations between poor physical performance outcomes and chronic GVHD, cardiac conditions, immune suppression, or treatment for a second malignant neoplasm.[182] In a study from the Fred Hutchison Cancer Research Center, poor performance was associated with myeloid disease.[173]

### Published Guidelines for Long-Term Follow-Up

Several organizations have published consensus guidelines for follow-up for late effects after HSCT. The CIBMTR, along with the American Society of Blood and Marrow Transplant (ASBMT), and in cooperation with five other international transplant groups, published consensus recommendations for screening and preventive practices for long-term survivors of HSCT.[183]

Although some pediatric-specific challenges are addressed in these guidelines, many important pediatric issues are not. Some of these issues have been partially covered by general guidelines published by the Children's Oncology Group (http://survivorshipguidelines.org/) (COG) and other children’s cancer groups (United Kingdom (https://www.cclg.org.uk/write/MediaUploads/Member%20area/Treatment%20guidelines/LTFU-full.pdf), Scotland (https://www.sign.ac.uk/our-guidelines/long-term-follow-up-of-survivors-of-childhood-cancer/)). The COG has also published more specific recommendations for late effects surveillance after HSCT.[184] To address the lack of detailed, pediatric-specific, late-effects data and guidelines for long-term follow-up after HSCT, the Pediatric Transplantation and Cellular Therapy Consortium (PTCTC) published six detailed papers outlining existing data and summarizing recommendations from key groups (CIBMTR/ASBMT, COG, and the United Kingdom), along with expert recommendations for pediatric-specific issues.[9,34,64,185-187]

Although international efforts at further standardization and harmonization of pediatric-specific follow-up guidelines are under way, the PTCTC summary and guideline recommendations provide a consensus outline for monitoring children for late effects after HSCT.[64]

### References

Sun CL, Francisco L, Kawashima T, et al.: Prevalence and predictors of chronic health conditions after hematopoietic cell transplantation: a report from the Bone Marrow Transplant Survivor Study. Blood 116 (17): 3129-39; quiz 3377, 2010.20656930
Bhatia S, Francisco L, Carter A, et al.: Late mortality after allogeneic hematopoietic cell transplantation and functional status of long-term survivors: report from the Bone Marrow Transplant Survivor Study. Blood 110 (10): 3784-92, 2007.17671231
Holmqvist AS, Chen Y, Hageman L, et al.: Severe, life-threatening, and fatal chronic health conditions after allogeneic blood or marrow transplantation in childhood. Cancer 129 (4): 624-633, 2023.36484292
Bhatia S, Robison LL, Francisco L, et al.: Late mortality in survivors of autologous hematopoietic-cell transplantation: report from the Bone Marrow Transplant Survivor Study. Blood 105 (11): 4215-22, 2005.15701723
Gooley TA, Chien JW, Pergam SA, et al.: Reduced mortality after allogeneic hematopoietic-cell transplantation. N Engl J Med 363 (22): 2091-101, 2010.21105791
Martin PJ, Counts GW, Appelbaum FR, et al.: Life expectancy in patients surviving more than 5 years after hematopoietic cell transplantation. J Clin Oncol 28 (6): 1011-6, 2010.20065176
Geenen MM, Cardous-Ubbink MC, Kremer LC, et al.: Medical assessment of adverse health outcomes in long-term survivors of childhood cancer. JAMA 297 (24): 2705-15, 2007.17595271
Oeffinger KC, Mertens AC, Sklar CA, et al.: Chronic health conditions in adult survivors of childhood cancer. N Engl J Med 355 (15): 1572-82, 2006.17035650
Bhatia S, Davies SM, Scott Baker K, et al.: NCI, NHLBI first international consensus conference on late effects after pediatric hematopoietic cell transplantation: etiology and pathogenesis of late effects after HCT performed in childhood--methodologic challenges. Biol Blood Marrow Transplant 17 (10): 1428-35, 2011.21763253
Behar E, Chao NJ, Hiraki DD, et al.: Polymorphism of adhesion molecule CD31 and its role in acute graft-versus-host disease. N Engl J Med 334 (5): 286-91, 1996.8532023
Goodman RS, Ewing J, Evans PC, et al.: Donor CD31 genotype and its association with acute graft-versus-host disease in HLA identical sibling stem cell transplantation. Bone Marrow Transplant 36 (2): 151-6, 2005.15908974
van Dalen EC, van der Pal HJ, Kok WE, et al.: Clinical heart failure in a cohort of children treated with anthracyclines: a long-term follow-up study. Eur J Cancer 42 (18): 3191-8, 2006.16987655
Duncan CN, Brazauskas R, Huang J, et al.: Late cardiovascular morbidity and mortality following pediatric allogeneic hematopoietic cell transplantation. Bone Marrow Transplant 53 (10): 1278-1287, 2018.29581480
Chow EJ, Mueller BA, Baker KS, et al.: Cardiovascular hospitalizations and mortality among recipients of hematopoietic stem cell transplantation. Ann Intern Med 155 (1): 21-32, 2011.21727290
Armenian SH, Sun CL, Francisco L, et al.: Late congestive heart failure after hematopoietic cell transplantation. J Clin Oncol 26 (34): 5537-43, 2008.18809605
Armenian SH, Sun CL, Mills G, et al.: Predictors of late cardiovascular complications in survivors of hematopoietic cell transplantation. Biol Blood Marrow Transplant 16 (8): 1138-44, 2010.20197101
Armenian SH, Sun CL, Kawashima T, et al.: Long-term health-related outcomes in survivors of childhood cancer treated with HSCT versus conventional therapy: a report from the Bone Marrow Transplant Survivor Study (BMTSS) and Childhood Cancer Survivor Study (CCSS). Blood 118 (5): 1413-20, 2011.21652685
Arvidson J, Kihlgren M, Hall C, et al.: Neuropsychological functioning after treatment for hematological malignancies in childhood, including autologous bone marrow transplantation. Pediatr Hematol Oncol 16 (1): 9-21, 1999 Jan-Feb.9932269
Barrera M, Atenafu E: Cognitive, educational, psychosocial adjustment and quality of life of children who survive hematopoietic SCT and their siblings. Bone Marrow Transplant 42 (1): 15-21, 2008.18372909
Kupst MJ, Penati B, Debban B, et al.: Cognitive and psychosocial functioning of pediatric hematopoietic stem cell transplant patients: a prospective longitudinal study. Bone Marrow Transplant 30 (9): 609-17, 2002.12407436
Phipps S, Brenner M, Heslop H, et al.: Psychological effects of bone marrow transplantation on children and adolescents: preliminary report of a longitudinal study. Bone Marrow Transplant 15 (6): 829-35, 1995.7581077
Phipps S, Rai SN, Leung WH, et al.: Cognitive and academic consequences of stem-cell transplantation in children. J Clin Oncol 26 (12): 2027-33, 2008.18421056
Phipps S, Dunavant M, Srivastava DK, et al.: Cognitive and academic functioning in survivors of pediatric bone marrow transplantation. J Clin Oncol 18 (5): 1004-11, 2000.10694550
Cognitive functioning after BMT. In: Pot-Mees CC: The Psychological Effects of Bone Marrow Transplantation in Children. Eburon Delft, 1989, pp 96–103.
Simms S, Kazak AE, Golomb V, et al.: Cognitive, behavioral, and social outcome in survivors of childhood stem cell transplantation. J Pediatr Hematol Oncol 24 (2): 115-9, 2002.11990696
Cool VA: Long-term neuropsychological risks in pediatric bone marrow transplant: what do we know? Bone Marrow Transplant 18 (Suppl 3): S45-9, 1996.8971408
Kramer JH, Crittenden MR, DeSantes K, et al.: Cognitive and adaptive behavior 1 and 3 years following bone marrow transplantation. Bone Marrow Transplant 19 (6): 607-13, 1997.9085740
Kramer JH, Crittenden MR, Halberg FE, et al.: A prospective study of cognitive functioning following low-dose cranial radiation for bone marrow transplantation. Pediatrics 90 (3): 447-50, 1992.1518705
Shah AJ, Epport K, Azen C, et al.: Progressive declines in neurocognitive function among survivors of hematopoietic stem cell transplantation for pediatric hematologic malignancies. J Pediatr Hematol Oncol 30 (6): 411-8, 2008.18525456
Smedler AC, Bolme P: Neuropsychological deficits in very young bone marrow transplant recipients. Acta Paediatr 84 (4): 429-33, 1995.7540899
Smedler AC, Winiarski J: Neuropsychological outcome in very young hematopoietic SCT recipients in relation to pretransplant conditioning. Bone Marrow Transplant 42 (8): 515-22, 2008.18679374
Willard VW, Leung W, Huang Q, et al.: Cognitive outcome after pediatric stem-cell transplantation: impact of age and total-body irradiation. J Clin Oncol 32 (35): 3982-8, 2014.25385724
McDonald GB: Hepatobiliary complications of hematopoietic cell transplantation, 40 years on. Hepatology 51 (4): 1450-60, 2010.20373370
Nieder ML, McDonald GB, Kida A, et al.: National Cancer Institute-National Heart, Lung and Blood Institute/pediatric Blood and Marrow Transplant Consortium First International Consensus Conference on late effects after pediatric hematopoietic cell transplantation: long-term organ damage and dysfunction. Biol Blood Marrow Transplant 17 (11): 1573-84, 2011.21963877
Mackey JR, Desai S, Larratt L, et al.: Myasthenia gravis in association with allogeneic bone marrow transplantation: clinical observations, therapeutic implications and review of literature. Bone Marrow Transplant 19 (9): 939-42, 1997.9156270
Shimada K, Yokozawa T, Atsuta Y, et al.: Solid tumors after hematopoietic stem cell transplantation in Japan: incidence, risk factors and prognosis. Bone Marrow Transplant 36 (2): 115-21, 2005.15908969
McDonald GB, Sullivan KM, Schuffler MD, et al.: Esophageal abnormalities in chronic graft-versus-host disease in humans. Gastroenterology 80 (5 pt 1): 914-21, 1981.7009315
McDonald GB, Sullivan KM, Plumley TF: Radiographic features of esophageal involvement in chronic graft-vs.-host disease. AJR Am J Roentgenol 142 (3): 501-6, 1984.6607634
Schima W, Pokieser P, Forstinger C, et al.: Videofluoroscopy of the pharynx and esophagus in chronic graft-versus-host disease. Abdom Imaging 19 (3): 191-4, 1994 May-Jun.8019340
Minocha A, Mandanas RA, Kida M, et al.: Bullous esophagitis due to chronic graft-versus-host disease. Am J Gastroenterol 92 (3): 529-30, 1997.9068490
Patey-Mariaud de Serre N, Reijasse D, Verkarre V, et al.: Chronic intestinal graft-versus-host disease: clinical, histological and immunohistochemical analysis of 17 children. Bone Marrow Transplant 29 (3): 223-30, 2002.11859394
Akpek G, Chinratanalab W, Lee LA, et al.: Gastrointestinal involvement in chronic graft-versus-host disease: a clinicopathologic study. Biol Blood Marrow Transplant 9 (1): 46-51, 2003.12533741
Filipovich AH, Weisdorf D, Pavletic S, et al.: National Institutes of Health consensus development project on criteria for clinical trials in chronic graft-versus-host disease: I. Diagnosis and staging working group report. Biol Blood Marrow Transplant 11 (12): 945-56, 2005.16338616
McDonald GB, Bouvier M, Hockenbery DM, et al.: Oral beclomethasone dipropionate for treatment of intestinal graft-versus-host disease: a randomized, controlled trial. Gastroenterology 115 (1): 28-35, 1998.9649455
Hockenbery DM, Cruickshank S, Rodell TC, et al.: A randomized, placebo-controlled trial of oral beclomethasone dipropionate as a prednisone-sparing therapy for gastrointestinal graft-versus-host disease. Blood 109 (10): 4557-63, 2007.17244684
Iyer RV, Hahn T, Roy HN, et al.: Long-term use of oral beclomethasone dipropionate for the treatment of gastrointestinal graft-versus-host disease. Biol Blood Marrow Transplant 11 (8): 587-92, 2005.16041308
Borgaonkar MR, Duggan PR, Adams G: Differing clinical manifestations of celiac disease transmitted by bone marrow transplantation. Dig Dis Sci 51 (1): 210-2, 2006.16416237
Sullivan KM, Shulman HM, Storb R, et al.: Chronic graft-versus-host disease in 52 patients: adverse natural course and successful treatment with combination immunosuppression. Blood 57 (2): 267-76, 1981.7004534
Tomás JF, Pinilla I, García-Buey ML, et al.: Long-term liver dysfunction after allogeneic bone marrow transplantation: clinical features and course in 61 patients. Bone Marrow Transplant 26 (6): 649-55, 2000.11035372
Strasser SI, Shulman HM, Flowers ME, et al.: Chronic graft-versus-host disease of the liver: presentation as an acute hepatitis. Hepatology 32 (6): 1265-71, 2000.11093733
Malik AH, Collins RH, Saboorian MH, et al.: Chronic graft-versus-host disease after hematopoietic cell transplantation presenting as an acute hepatitis. Am J Gastroenterol 96 (2): 588-90, 2001.11232714
Akpek G, Boitnott JK, Lee LA, et al.: Hepatitic variant of graft-versus-host disease after donor lymphocyte infusion. Blood 100 (12): 3903-7, 2002.12393729
Shulman HM, Sharma P, Amos D, et al.: A coded histologic study of hepatic graft-versus-host disease after human bone marrow transplantation. Hepatology 8 (3): 463-70, 1988 May-Jun.3131226
Strasser SI, Myerson D, Spurgeon CL, et al.: Hepatitis C virus infection and bone marrow transplantation: a cohort study with 10-year follow-up. Hepatology 29 (6): 1893-9, 1999.10347135
Ljungman P, Johansson N, Aschan J, et al.: Long-term effects of hepatitis C virus infection in allogeneic bone marrow transplant recipients. Blood 86 (4): 1614-8, 1995.7632971
Strasser SI, Sullivan KM, Myerson D, et al.: Cirrhosis of the liver in long-term marrow transplant survivors. Blood 93 (10): 3259-66, 1999.10233877
Peffault de Latour R, Lévy V, Asselah T, et al.: Long-term outcome of hepatitis C infection after bone marrow transplantation. Blood 103 (5): 1618-24, 2004.14576071
Ko CW, Murakami C, Sekijima JH, et al.: Chemical composition of gallbladder sludge in patients after marrow transplantation. Am J Gastroenterol 91 (6): 1207-10, 1996.8651172
Akpek G, Valladares JL, Lee L, et al.: Pancreatic insufficiency in patients with chronic graft-versus-host disease. Bone Marrow Transplant 27 (2): 163-6, 2001.11281385
Maringhini A, Gertz MA, DiMagno EP: Exocrine pancreatic insufficiency after allogeneic bone marrow transplantation. Int J Pancreatol 17 (3): 243-7, 1995.7642972
Radu B, Allez M, Gornet JM, et al.: Chronic diarrhoea after allogenic bone marrow transplantation. Gut 54 (1): 161, 174, 2005.15591522
Mariotti E, Angelucci E, Agostini A, et al.: Evaluation of cardiac status in iron-loaded thalassaemia patients following bone marrow transplantation: improvement in cardiac function during reduction in body iron burden. Br J Haematol 103 (4): 916-21, 1998.9886301
Angelucci E, Muretto P, Lucarelli G, et al.: Treatment of iron overload in the "ex-thalassemic". Report from the phlebotomy program. Ann N Y Acad Sci 850: 288-93, 1998.9668550
Pulsipher MA, Skinner R, McDonald GB, et al.: National Cancer Institute, National Heart, Lung and Blood Institute/Pediatric Blood and Marrow Transplantation Consortium First International Consensus Conference on late effects after pediatric hematopoietic cell transplantation: the need for pediatric-specific long-term follow-up guidelines. Biol Blood Marrow Transplant 18 (3): 334-47, 2012.22248713
Sanders JE, Hoffmeister PA, Woolfrey AE, et al.: Thyroid function following hematopoietic cell transplantation in children: 30 years' experience. Blood 113 (2): 306-8, 2009.18838614
Bailey HK, Kappy MS, Giller RH, et al.: Time-course and risk factors of hypothyroidism following allogeneic hematopoietic stem cell transplantation (HSCT) in children conditioned with fractionated total body irradiation. Pediatr Blood Cancer 51 (3): 405-9, 2008.18523993
Ishiguro H, Yasuda Y, Tomita Y, et al.: Long-term follow-up of thyroid function in patients who received bone marrow transplantation during childhood and adolescence. J Clin Endocrinol Metab 89 (12): 5981-6, 2004.15579747
Michel G, Socié G, Gebhard F, et al.: Late effects of allogeneic bone marrow transplantation for children with acute myeloblastic leukemia in first complete remission: the impact of conditioning regimen without total-body irradiation--a report from the Société Française de Greffe de Moelle. J Clin Oncol 15 (6): 2238-46, 1997.9196136
Afify Z, Shaw PJ, Clavano-Harding A, et al.: Growth and endocrine function in children with acute myeloid leukaemia after bone marrow transplantation using busulfan/cyclophosphamide. Bone Marrow Transplant 25 (10): 1087-92, 2000.10828870
Slatter MA, Gennery AR, Cheetham TD, et al.: Thyroid dysfunction after bone marrow transplantation for primary immunodeficiency without the use of total body irradiation in conditioning. Bone Marrow Transplant 33 (9): 949-53, 2004.15004542
Berger C, Le-Gallo B, Donadieu J, et al.: Late thyroid toxicity in 153 long-term survivors of allogeneic bone marrow transplantation for acute lymphoblastic leukaemia. Bone Marrow Transplant 35 (10): 991-5, 2005.15806126
Leung W, Ahn H, Rose SR, et al.: A prospective cohort study of late sequelae of pediatric allogeneic hematopoietic stem cell transplantation. Medicine (Baltimore) 86 (4): 215-24, 2007.17632263
Dvorak CC, Wright NB, Wong WB, et al.: Safety of hematopoietic stem cell transplantation in children less than three years of age. Pediatr Hematol Oncol 25 (8): 705-22, 2008.19065437
Sanders JE, Woolfrey AE, Carpenter PA, et al.: Late effects among pediatric patients followed for nearly 4 decades after transplantation for severe aplastic anemia. Blood 118 (5): 1421-8, 2011.21653322
Cattoni A, Molinari S, Gaiero A, et al.: Thyroid Disorders Following Hematopoietic Stem Cell Transplantation in Childhood: Impact of Conditioning Regimen on Thyroid Dysfunction, Volume Changes, and Occurrence of Nodules. Transplant Cell Ther 28 (8): 506.e1-506.e12, 2022.35660063
Socié G, Salooja N, Cohen A, et al.: Nonmalignant late effects after allogeneic stem cell transplantation. Blood 101 (9): 3373-85, 2003.12511420 22592436
Katsanis E, Shapiro RS, Robison LL, et al.: Thyroid dysfunction following bone marrow transplantation: long-term follow-up of 80 pediatric patients. Bone Marrow Transplant 5 (5): 335-40, 1990.2350628
Savani BN, Koklanaris EK, Le Q, et al.: Prolonged chronic graft-versus-host disease is a risk factor for thyroid failure in long-term survivors after matched sibling donor stem cell transplantation for hematologic malignancies. Biol Blood Marrow Transplant 15 (3): 377-81, 2009.19203730
Huma Z, Boulad F, Black P, et al.: Growth in children after bone marrow transplantation for acute leukemia. Blood 86 (2): 819-24, 1995.7606013 95329743
Giorgiani G, Bozzola M, Locatelli F, et al.: Role of busulfan and total body irradiation on growth of prepubertal children receiving bone marrow transplantation and results of treatment with recombinant human growth hormone. Blood 86 (2): 825-31, 1995.7606014
Cohen A, Rovelli A, Van-Lint MT, et al.: Final height of patients who underwent bone marrow transplantation during childhood. Arch Dis Child 74 (5): 437-40, 1996.8669961
Sanders JE, Guthrie KA, Hoffmeister PA, et al.: Final adult height of patients who received hematopoietic cell transplantation in childhood. Blood 105 (3): 1348-54, 2005.15454481
Cohen A, Rovelli A, Bakker B, et al.: Final height of patients who underwent bone marrow transplantation for hematological disorders during childhood: a study by the Working Party for Late Effects-EBMT. Blood 93 (12): 4109-15, 1999.10361107 99290764
Eggleston B, Patience M, Edwards S, et al.: Effect of myeloablative bone marrow transplantation on growth in children with sickle cell anaemia: results of the multicenter study of haematopoietic cell transplantation for sickle cell anaemia. Br J Haematol 136 (4): 673-6, 2007.17223910
Reusch JE: Current concepts in insulin resistance, type 2 diabetes mellitus, and the metabolic syndrome. Am J Cardiol 90 (5A): 19G-26G, 2002.12231075
Trevisan M, Liu J, Bahsas FB, et al.: Syndrome X and mortality: a population-based study. Risk Factor and Life Expectancy Research Group. Am J Epidemiol 148 (10): 958-66, 1998.9829867
Lakka HM, Laaksonen DE, Lakka TA, et al.: The metabolic syndrome and total and cardiovascular disease mortality in middle-aged men. JAMA 288 (21): 2709-16, 2002.12460094
Taskinen M, Saarinen-Pihkala UM, Hovi L, et al.: Impaired glucose tolerance and dyslipidaemia as late effects after bone-marrow transplantation in childhood. Lancet 356 (9234): 993-7, 2000.11041401
Baker KS, Ness KK, Steinberger J, et al.: Diabetes, hypertension, and cardiovascular events in survivors of hematopoietic cell transplantation: a report from the bone marrow transplantation survivor study. Blood 109 (4): 1765-72, 2007.17047152
Eaton SB, Cordain L, Sparling PB: Evolution, body composition, insulin receptor competition, and insulin resistance. Prev Med 49 (4): 283-5, 2009.19686772
Boirie Y: Physiopathological mechanism of sarcopenia. J Nutr Health Aging 13 (8): 717-23, 2009.19657556
Baker KS, Chow E, Goodman P, et al.: Adverse Impact of hematopoietic cell transplantation (HCT) on body composition and insulin resistance (IR) is associated with increased cardiovascular risk. [Abstract] Biol Blood Marrow Transplant 17 (2 Suppl): A-61, S174, 2011.
Cook S, Weitzman M, Auinger P, et al.: Prevalence of a metabolic syndrome phenotype in adolescents: findings from the third National Health and Nutrition Examination Survey, 1988-1994. Arch Pediatr Adolesc Med 157 (8): 821-7, 2003.12912790
Genuth S, Alberti KG, Bennett P, et al.: Follow-up report on the diagnosis of diabetes mellitus. Diabetes Care 26 (11): 3160-7, 2003.14578255
Grundy SM, Brewer HB, Cleeman JI, et al.: Definition of metabolic syndrome: Report of the National Heart, Lung, and Blood Institute/American Heart Association conference on scientific issues related to definition. Circulation 109 (3): 433-8, 2004.14744958
Petryk A, Bergemann TL, Polga KM, et al.: Prospective study of changes in bone mineral density and turnover in children after hematopoietic cell transplantation. J Clin Endocrinol Metab 91 (3): 899-905, 2006.16352681
Bhatia S, Ramsay NK, Weisdorf D, et al.: Bone mineral density in patients undergoing bone marrow transplantation for myeloid malignancies. Bone Marrow Transplant 22 (1): 87-90, 1998.9678801 98341941
Nysom K, Holm K, Michaelsen KF, et al.: Bone mass after allogeneic BMT for childhood leukaemia or lymphoma. Bone Marrow Transplant 25 (2): 191-6, 2000.10673679 20139339
Daniels MW, Wilson DM, Paguntalan HG, et al.: Bone mineral density in pediatric transplant recipients. Transplantation 76 (4): 673-8, 2003.12973107
Kaste SC, Shidler TJ, Tong X, et al.: Bone mineral density and osteonecrosis in survivors of childhood allogeneic bone marrow transplantation. Bone Marrow Transplant 33 (4): 435-41, 2004.14716354
Perkins JL, Kunin-Batson AS, Youngren NM, et al.: Long-term follow-up of children who underwent hematopoeitic cell transplant (HCT) for AML or ALL at less than 3 years of age. Pediatr Blood Cancer 49 (7): 958-63, 2007.17474113
Carpenter PA, Hoffmeister P, Chesnut CH, et al.: Bisphosphonate therapy for reduced bone mineral density in children with chronic graft-versus-host disease. Biol Blood Marrow Transplant 13 (6): 683-90, 2007.17531778
Weilbaecher KN: Mechanisms of osteoporosis after hematopoietic cell transplantation. Biol Blood Marrow Transplant 6 (2A): 165-74, 2000.10816024
Rodgers C, Monroe R: Osteopenia and osteoporosis in pediatric patients after stem cell transplant. J Pediatr Oncol Nurs 24 (4): 184-9, 2007 Jul-Aug.17588890
McClune BL, Polgreen LE, Burmeister LA, et al.: Screening, prevention and management of osteoporosis and bone loss in adult and pediatric hematopoietic cell transplant recipients. Bone Marrow Transplant 46 (1): 1-9, 2011.20729922
Schulte CM, Beelen DW: Bone loss following hematopoietic stem cell transplantation: a long-term follow-up. Blood 103 (10): 3635-43, 2004.14630805
Schimmer AD, Minden MD, Keating A: Osteoporosis after blood and marrow transplantation: clinical aspects. Biol Blood Marrow Transplant 6 (2A): 175-81, 2000.10816025
Banfi A, Podestà M, Fazzuoli L, et al.: High-dose chemotherapy shows a dose-dependent toxicity to bone marrow osteoprogenitors: a mechanism for post-bone marrow transplantation osteopenia. Cancer 92 (9): 2419-28, 2001.11745299
Castañeda S, Carmona L, Carvajal I, et al.: Reduction of bone mass in women after bone marrow transplantation. Calcif Tissue Int 60 (4): 343-7, 1997.9075630
Lee WY, Baek KH, Rhee EJ, et al.: Impact of circulating bone-resorbing cytokines on the subsequent bone loss following bone marrow transplantation. Bone Marrow Transplant 34 (1): 89-94, 2004.15170175
Baker KS, Gurney JG, Ness KK, et al.: Late effects in survivors of chronic myeloid leukemia treated with hematopoietic cell transplantation: results from the Bone Marrow Transplant Survivor Study. Blood 104 (6): 1898-906, 2004.15172972
Stern JM, Sullivan KM, Ott SM, et al.: Bone density loss after allogeneic hematopoietic stem cell transplantation: a prospective study. Biol Blood Marrow Transplant 7 (5): 257-64, 2001.11400947
Ebeling PR, Thomas DM, Erbas B, et al.: Mechanisms of bone loss following allogeneic and autologous hemopoietic stem cell transplantation. J Bone Miner Res 14 (3): 342-50, 1999.10027899
Tauchmanovà L, De Rosa G, Serio B, et al.: Avascular necrosis in long-term survivors after allogeneic or autologous stem cell transplantation: a single center experience and a review. Cancer 97 (10): 2453-61, 2003.12733144
Kananen K, Volin L, Tähtelä R, et al.: Recovery of bone mass and normalization of bone turnover in long-term survivors of allogeneic bone marrow transplantation. Bone Marrow Transplant 29 (1): 33-9, 2002.11840142
Socié G, Cahn JY, Carmelo J, et al.: Avascular necrosis of bone after allogeneic bone marrow transplantation: analysis of risk factors for 4388 patients by the Société Française de Greffe de Moëlle (SFGM). Br J Haematol 97 (4): 865-70, 1997.9217190
Faraci M, Calevo MG, Lanino E, et al.: Osteonecrosis after allogeneic stem cell transplantation in childhood. A case-control study in Italy. Haematologica 91 (8): 1096-9, 2006.16885050
Enright H, Haake R, Weisdorf D: Avascular necrosis of bone: a common serious complication of allogeneic bone marrow transplantation. Am J Med 89 (6): 733-8, 1990.2252042
Sharma S, Yang S, Rochester R, et al.: Prevalence of osteonecrosis and associated risk factors in children before allogeneic BMT. Bone Marrow Transplant 46 (6): 813-9, 2011.20818446
Bürger B, Beier R, Zimmermann M, et al.: Osteonecrosis: a treatment related toxicity in childhood acute lymphoblastic leukemia (ALL)--experiences from trial ALL-BFM 95. Pediatr Blood Cancer 44 (3): 220-5, 2005.15514916
Mattano LA, Sather HN, Trigg ME, et al.: Osteonecrosis as a complication of treating acute lymphoblastic leukemia in children: a report from the Children's Cancer Group. J Clin Oncol 18 (18): 3262-72, 2000.10986059 20442263
Li X, Brazauskas R, Wang Z, et al.: Avascular necrosis of bone after allogeneic hematopoietic cell transplantation in children and adolescents. Biol Blood Marrow Transplant 20 (4): 587-92, 2014.24388803
Baker KS, Petryk A: Growth and development after hematopoietic cell transplantation. In: Appelbaum FR, Forman SJ, Negrin RS, et al., eds.: Thomas' Hematopoietic Cell Transplantation: Stem Cell Transplantation. 5th ed. John Wiley & Sons Inc., 2015, pp 1257-65.
Sanders JE, Flournoy N, Thomas ED, et al.: Marrow transplant experience in children with acute lymphoblastic leukemia: an analysis of factors associated with survival, relapse, and graft-versus-host disease. Med Pediatr Oncol 13 (4): 165-72, 1985.3892260
Sanders JE, Hawley J, Levy W, et al.: Pregnancies following high-dose cyclophosphamide with or without high-dose busulfan or total-body irradiation and bone marrow transplantation. Blood 87 (7): 3045-52, 1996.8639928 96220004
Carter A, Robison LL, Francisco L, et al.: Prevalence of conception and pregnancy outcomes after hematopoietic cell transplantation: report from the Bone Marrow Transplant Survivor Study. Bone Marrow Transplant 37 (11): 1023-9, 2006.16604098
Salooja N, Szydlo RM, Socie G, et al.: Pregnancy outcomes after peripheral blood or bone marrow transplantation: a retrospective survey. Lancet 358 (9278): 271-6, 2001.11498213
Loren AW, Chow E, Jacobsohn DA, et al.: Pregnancy after hematopoietic cell transplantation: a report from the late effects working committee of the Center for International Blood and Marrow Transplant Research (CIBMTR). Biol Blood Marrow Transplant 17 (2): 157-66, 2011.20659574
Shalet SM, Didi M, Ogilvy-Stuart AL, et al.: Growth and endocrine function after bone marrow transplantation. Clin Endocrinol (Oxf) 42 (4): 333-9, 1995.7750186
Schubert MA, Sullivan KM, Schubert MM, et al.: Gynecological abnormalities following allogeneic bone marrow transplantation. Bone Marrow Transplant 5 (6): 425-30, 1990.2369683 90315513
Howell SJ, Shalet SM: Spermatogenesis after cancer treatment: damage and recovery. J Natl Cancer Inst Monogr (34): 12-7, 2005.15784814
Anserini P, Chiodi S, Spinelli S, et al.: Semen analysis following allogeneic bone marrow transplantation. Additional data for evidence-based counselling. Bone Marrow Transplant 30 (7): 447-51, 2002.12368957
Panasiuk A, Nussey S, Veys P, et al.: Gonadal function and fertility after stem cell transplantation in childhood: comparison of a reduced intensity conditioning regimen containing melphalan with a myeloablative regimen containing busulfan. Br J Haematol 170 (5): 719-26, 2015.25974284
Leiper A, Houwing M, Davies EG, et al.: Anti-Müllerian hormone and Inhibin B after stem cell transplant in childhood: a comparison of myeloablative, reduced intensity and treosulfan-based chemotherapy regimens. Bone Marrow Transplant 55 (10): 1985-1995, 2020.32231250
Cattoni A, Nicolosi ML, Capitoli G, et al.: Pubertal attainment and Leydig cell function following pediatric hematopoietic stem cell transplantation: a three-decade longitudinal assessment. Front Endocrinol (Lausanne) 14: 1292683, 2023.38152128
Bender JD, Oquendo-Del Toro H, Benoit J, et al.: Reduced-Intensity Conditioning Mitigates Risk for Primary Ovarian Insufficiency but Does Not Decrease Risk for Infertility in Pediatric and Young Adult Survivors of Hematopoietic Stem Cell Transplantation. Transplant Cell Ther 29 (2): 130.e1-130.e8, 2023.36323400
Rotz SJ, Hamilton BK, Wei W, et al.: Fertility Potential and Gonadal Function in Survivors of Reduced-Intensity Hematopoietic Stem Cell Transplantation. Transplant Cell Ther 30 (5): 534.e1-534.e13, 2024.38342136
Yoshihara S, Yanik G, Cooke KR, et al.: Bronchiolitis obliterans syndrome (BOS), bronchiolitis obliterans organizing pneumonia (BOOP), and other late-onset noninfectious pulmonary complications following allogeneic hematopoietic stem cell transplantation. Biol Blood Marrow Transplant 13 (7): 749-59, 2007.17580252
Chien JW, Duncan S, Williams KM, et al.: Bronchiolitis obliterans syndrome after allogeneic hematopoietic stem cell transplantation-an increasingly recognized manifestation of chronic graft-versus-host disease. Biol Blood Marrow Transplant 16 (1 Suppl): S106-14, 2010.19896545
Hildebrandt GC, Fazekas T, Lawitschka A, et al.: Diagnosis and treatment of pulmonary chronic GVHD: report from the consensus conference on clinical practice in chronic GVHD. Bone Marrow Transplant 46 (10): 1283-95, 2011.21441964
Chien JW, Martin PJ, Gooley TA, et al.: Airflow obstruction after myeloablative allogeneic hematopoietic stem cell transplantation. Am J Respir Crit Care Med 168 (2): 208-14, 2003.12649126
Cerveri I, Zoia MC, Fulgoni P, et al.: Late pulmonary sequelae after childhood bone marrow transplantation. Thorax 54 (2): 131-5, 1999.10325917
Uhlving HH, Bang CL, Christensen IJ, et al.: Lung function after allogeneic hematopoietic stem cell transplantation in children: a longitudinal study in a population-based cohort. Biol Blood Marrow Transplant 19 (9): 1348-54, 2013.23769819
Freudenberger TD, Madtes DK, Curtis JR, et al.: Association between acute and chronic graft-versus-host disease and bronchiolitis obliterans organizing pneumonia in recipients of hematopoietic stem cell transplants. Blood 102 (10): 3822-8, 2003.12869516
Houdouin V, Dubus JC, Crepon SG, et al.: Late-onset pulmonary complications following allogeneic hematopoietic cell transplantation in pediatric patients: a prospective multicenter study. Bone Marrow Transplant 59 (6): 858-866, 2024.38454132
Chien JW, Zhao LP, Hansen JA, et al.: Genetic variation in bactericidal/permeability-increasing protein influences the risk of developing rapid airflow decline after hematopoietic cell transplantation. Blood 107 (5): 2200-7, 2006.16304058
Hildebrandt GC, Granell M, Urbano-Ispizua A, et al.: Recipient NOD2/CARD15 variants: a novel independent risk factor for the development of bronchiolitis obliterans after allogeneic stem cell transplantation. Biol Blood Marrow Transplant 14 (1): 67-74, 2008.18158963
Shanthikumar S, Gower WA, Srinivasan S, et al.: Detection of Bronchiolitis Obliterans Syndrome after Pediatric Hematopoietic Stem Cell Transplantation: An Official American Thoracic Society Clinical Practice Guideline. Am J Respir Crit Care Med 210 (3): 262-280, 2024.38889365
Cooke KR, Yanik G: Lung injury following hematopoietic stem cell transplantation. In: Appelbaum FR, Forman SJ, Negrin RS, et al., eds.: Thomas' Hematopoietic Cell Transplantation: Stem Cell Transplantation. 5th ed. John Wiley & Sons Inc., 2015, pp 1156-69.
Yanik GA, Mineishi S, Levine JE, et al.: Soluble tumor necrosis factor receptor: enbrel (etanercept) for subacute pulmonary dysfunction following allogeneic stem cell transplantation. Biol Blood Marrow Transplant 18 (7): 1044-54, 2012.22155140
Norman BC, Jacobsohn DA, Williams KM, et al.: Fluticasone, azithromycin and montelukast therapy in reducing corticosteroid exposure in bronchiolitis obliterans syndrome after allogeneic hematopoietic SCT: a case series of eight patients. Bone Marrow Transplant 46 (10): 1369-73, 2011.21132024
Ellis MJ, Parikh CR, Inrig JK, et al.: Chronic kidney disease after hematopoietic cell transplantation: a systematic review. Am J Transplant 8 (11): 2378-90, 2008.18925905
Choi M, Sun CL, Kurian S, et al.: Incidence and predictors of delayed chronic kidney disease in long-term survivors of hematopoietic cell transplantation. Cancer 113 (7): 1580-7, 2008.18704986
Ando M, Ohashi K, Akiyama H, et al.: Chronic kidney disease in long-term survivors of myeloablative allogeneic haematopoietic cell transplantation: prevalence and risk factors. Nephrol Dial Transplant 25 (1): 278-82, 2010.19762604
Avcı B, Bilir ÖA, Özlü SG, et al.: Acute kidney injury and risk factors in pediatric patients undergoing hematopoietic stem cell transplantation. Pediatr Nephrol 39 (7): 2199-2207, 2024.38324191
Cohen EP, Piering WF, Kabler-Babbitt C, et al.: End-stage renal disease (ESRD)after bone marrow transplantation: poor survival compar ed to other causes of ESRD. Nephron 79 (4): 408-12, 1998.9689155
Cohen EP, Irving AA, Drobyski WR, et al.: Captopril to mitigate chronic renal failure after hematopoietic stem cell transplantation: a randomized controlled trial. Int J Radiat Oncol Biol Phys 70 (5): 1546-51, 2008.18029109
Wilson IB, Cleary PD: Linking clinical variables with health-related quality of life. A conceptual model of patient outcomes. JAMA 273 (1): 59-65, 1995.7996652
Eisen M, Donald CA, Ware JE, et al.: Conceptualization and Measurement of Health for Children in the Health Insurance Study. Rand Corporation, 1980.
Parsons SK, Barlow SE, Levy SL, et al.: Health-related quality of life in pediatric bone marrow transplant survivors: according to whom? Int J Cancer Suppl 12: 46-51, 1999.10679870
Barrera M, Atenafu E, Hancock K: Longitudinal health-related quality of life outcomes and related factors after pediatric SCT. Bone Marrow Transplant 44 (4): 249-56, 2009.19234504
Parsons SK, Shih MC, Duhamel KN, et al.: Maternal perspectives on children's health-related quality of life during the first year after pediatric hematopoietic stem cell transplant. J Pediatr Psychol 31 (10): 1100-15, 2006 Nov-Dec.16150874
Barrera M, Boyd-Pringle LA, Sumbler K, et al.: Quality of life and behavioral adjustment after pediatric bone marrow transplantation. Bone Marrow Transplant 26 (4): 427-35, 2000.10982290
Jobe-Shields L, Alderfer MA, Barrera M, et al.: Parental depression and family environment predict distress in children before stem cell transplantation. J Dev Behav Pediatr 30 (2): 140-6, 2009.19322103
Vrijmoet-Wiersma CM, Kolk AM, Grootenhuis MA, et al.: Child and parental adaptation to pediatric stem cell transplantation. Support Care Cancer 17 (6): 707-14, 2009.19050939
Felder-Puig R, di Gallo A, Waldenmair M, et al.: Health-related quality of life of pediatric patients receiving allogeneic stem cell or bone marrow transplantation: results of a longitudinal, multi-center study. Bone Marrow Transplant 38 (2): 119-26, 2006.16820782
Parsons SK, Ratichek SJ, Rodday AM: Caring for the caregiver: eHealth interventions for parents of pediatric hematopoietic stem cell transplant recipients. [Abstract] Pediatr Blood Cancer 56 (7): 1157, 2011.
Brice L, Weiss R, Wei Y, et al.: Health-related quality of life (HRQoL): the impact of medical and demographic variables upon pediatric recipients of hematopoietic stem cell transplantation. Pediatr Blood Cancer 57 (7): 1179-85, 2011.21520396
Kaplan SH, Barlow S, Spetter D: Assessing functional status and health-related quality of life among school-aged children: reliability and validity of a new self-reported measure. [Abstract] Qual Life Res 4 (5): 444-45, 1995.
Barrera M, Atenafu E, Doyle J, et al.: Differences in mothers' and fathers' health-related quality of life after pediatric SCT: a longitudinal study. Bone Marrow Transplant 47 (6): 855-9, 2012.21946382
Feichtl RE, Rosenfeld B, Tallamy B, et al.: Concordance of quality of life assessments following pediatric hematopoietic stem cell transplantation. Psychooncology 19 (7): 710-7, 2010.19823975
Löf CM, Winiarski J, Giesecke A, et al.: Health-related quality of life in adult survivors after paediatric allo-SCT. Bone Marrow Transplant 43 (6): 461-8, 2009.18936733
Sanders JE, Hoffmeister PA, Storer BE, et al.: The quality of life of adult survivors of childhood hematopoietic cell transplant. Bone Marrow Transplant 45 (4): 746-54, 2010.19718073
Duell T, van Lint MT, Ljungman P, et al.: Health and functional status of long-term survivors of bone marrow transplantation. EBMT Working Party on Late Effects and EULEP Study Group on Late Effects. European Group for Blood and Marrow Transplantation. Ann Intern Med 126 (3): 184-92, 1997.9027268
Schmidt GM, Niland JC, Forman SJ, et al.: Extended follow-up in 212 long-term allogeneic bone marrow transplant survivors. Issues of quality of life. Transplantation 55 (3): 551-7, 1993.8456476
Helder DI, Bakker B, de Heer P, et al.: Quality of life in adults following bone marrow transplantation during childhood. Bone Marrow Transplant 33 (3): 329-36, 2004.14647247
Michel G, Bordigoni P, Simeoni MC, et al.: Health status and quality of life in long-term survivors of childhood leukaemia: the impact of haematopoietic stem cell transplantation. Bone Marrow Transplant 40 (9): 897-904, 2007.17704791
Ness KK, Bhatia S, Baker KS, et al.: Performance limitations and participation restrictions among childhood cancer survivors treated with hematopoietic stem cell transplantation: the bone marrow transplant survivor study. Arch Pediatr Adolesc Med 159 (8): 706-13, 2005.16061776
Larsen RL, Barber G, Heise CT, et al.: Exercise assessment of cardiac function in children and young adults before and after bone marrow transplantation. Pediatrics 89 (4 Pt 2): 722-9, 1992.1557268
Eames GM, Crosson J, Steinberger J, et al.: Cardiovascular function in children following bone marrow transplant: a cross-sectional study. Bone Marrow Transplant 19 (1): 61-6, 1997.9012933 97165172
Hogarty AN, Leahey A, Zhao H, et al.: Longitudinal evaluation of cardiopulmonary performance during exercise after bone marrow transplantation in children. J Pediatr 136 (3): 311-7, 2000.10700686 20167249
Fraser CJ, Bhatia S, Ness K, et al.: Impact of chronic graft-versus-host disease on the health status of hematopoietic cell transplantation survivors: a report from the Bone Marrow Transplant Survivor Study. Blood 108 (8): 2867-73, 2006.16788100
Rizzo JD, Wingard JR, Tichelli A, et al.: Recommended screening and preventive practices for long-term survivors after hematopoietic cell transplantation: joint recommendations of the European Group for Blood and Marrow Transplantation, Center for International Blood and Marrow Transplant Research, and the American Society for Blood and Marrow Transplantation (EBMT/CIBMTR/ASBMT). Bone Marrow Transplant 37 (3): 249-61, 2006.16435004
Chow EJ, Anderson L, Baker KS, et al.: Late Effects Surveillance Recommendations among Survivors of Childhood Hematopoietic Cell Transplantation: A Children's Oncology Group Report. Biol Blood Marrow Transplant 22 (5): 782-95, 2016.26802323
Bunin N, Small T, Szabolcs P, et al.: NCI, NHLBI/PBMTC first international conference on late effects after pediatric hematopoietic cell transplantation: persistent immune deficiency in pediatric transplant survivors. Biol Blood Marrow Transplant 18 (1): 6-15, 2012.22100979
Dvorak CC, Gracia CR, Sanders JE, et al.: NCI, NHLBI/PBMTC first international conference on late effects after pediatric hematopoietic cell transplantation: endocrine challenges-thyroid dysfunction, growth impairment, bone health, & reproductive risks. Biol Blood Marrow Transplant 17 (12): 1725-38, 2011.22005649
Parsons SK, Phipps S, Sung L, et al.: NCI, NHLBI/PBMTC First International Conference on Late Effects after Pediatric Hematopoietic Cell Transplantation: health-related quality of life, functional, and neurocognitive outcomes. Biol Blood Marrow Transplant 18 (2): 162-71, 2012.22155139

## Latest Updates to This Summary (12/02/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Hematopoietic Stem Cell Transplant (HSCT)–Related Acute Complications

Added text to state that another retrospective multicenter study that examined the use of eculizumab demonstrated a 6-month response rate of 62% and a 1-year overall survival rate of 55% (cited Benítez Carabante et al. as reference 52).

Added text to state that an analysis of the Center for International Blood and Marrow Transplant Research registry showed similar relapse-free survival for mismatched unrelated-donor recipients using abatacept or posttransplant cyclophosphamide (cited Kean et al. as reference 96).

Added Admiraal et al. as reference 102.

Added text to state that similar to unrelated-donor bone marrow and cord blood HSCT, outcomes improved after T-cell receptor alpha beta/CD19 depletion when rabbit antithymocyte globulin was targeted to specific pre- and post-HSCT exposures (cited Dvorak et al. as reference 109).

Added Locatelli et al. as reference 115.

Late Effects After Hematopoietic Stem Cell Transplant (HSCT) in Children

Added text about the results of a multi-institutional, international, retrospective cohort study that included 326 adolescent and young adult patients and assessed fertility potential and gonadal failure 1 to 2 years after HSCT in patients who received myeloablative conditioning versus reduced-intensity conditioning (cited Rotz et al. as reference 137).

Added Houdouin et al. as reference 145, Shanthikumar et al. as reference 148, and Avcı et al. as reference 155.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the complications, graft-versus-host disease, and late effects after hematopoietic stem cell transplant for the treatment of pediatric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Complications, Graft-Versus-Host Disease, and Late Effects After Pediatric Hematopoietic Stem Cell Transplant are:

- Thomas G. Gross, MD, PhD (National Cancer Institute)
- Michael A. Pulsipher, MD (Huntsman Cancer Institute at University of Utah)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Complications, Graft-Versus-Host Disease, and Late Effects After Pediatric Hematopoietic Stem Cell Transplant. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/hp-stem-cell-transplant/gvhd. Accessed <MM/DD/YYYY>. [PMID: 35133768]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).